# Sexuality and Reproductive Issues (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about sexuality and reproductive issues that cancer patients may experience during or after treatment. It is intended as a resource to inform and assist clinicians who care for cancer patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## The Prevalence and Types of Sexual Dysfunction in People With Cancer

Sexuality is a complex, multidimensional phenomenon that incorporates biologic, psychologic, interpersonal, and behavioral dimensions. It is important to recognize that a wide range of normal sexual functioning exists. Ultimately, sexuality is defined by each patient and his/her partner within a context of factors such as gender, age, personal attitudes, and religious and cultural values.

Many types of cancer and cancer therapies are frequently associated with sexual dysfunction. Across sites, estimates of sexual dysfunction after various cancer treatments have ranged from 40% to 100%.[1] Most of the information relates to women who have breast or gynecologic cancer and men who have prostate cancer. Less is known about how other types of cancers—in particular, other solid tumors—affect sexuality. Research suggests that about 50% of women who have had breast cancer experience long-term sexual dysfunction,[2,3] as do a similar proportion of women who have had gynecologic cancer.[4] For men with prostate cancer, erectile dysfunction (erections inadequate for intercourse) has been the primary form of sexual dysfunction investigated. Prevalence rates of erectile dysfunction have varied. In general, those studies that have used patients’ self-reports have found higher rates of erectile dysfunction ranging from 60% to 90% after radical prostatectomy and between 67% and 85% following external-beam radiation therapy.[5-8] Erectile dysfunction appears to be least prevalent with brachytherapy and most prevalent when cryotherapy is used to treat localized prostate cancer.[9] For Hodgkin lymphoma and testicular cancer, 25% of people who have had these cancers are left with long-term sexual problems.[3,10]

Several summary articles on sexuality and cancer give particular emphasis on cancer sites that have a direct impact on sexual functioning.[11-13] An individual’s sexual response can be affected in a number of ways, and the causes of sexual dysfunction are often both physiological and psychological. The most common sexual problems for people with cancer are the following:[3]

- Loss of desire for sexual activity in men and women.
- Erectile dysfunction in men.
- Dyspareunia (pain with intercourse) in women.

Men may also experience the following:

- Anejaculation (absence of ejaculation).
- Retrograde ejaculation (ejaculation going backward to the bladder).
- Inability to reach orgasm.

Women may experience the following:

- Changes in genital sensations due to pain or a loss of sensation and numbness.
- Decreased ability to reach orgasm.

Loss of sensation can be as distressing as painful sensation for some individuals.[14] In women, premature ovarian failure as a result of chemotherapy or pelvic radiation therapy is a frequent antecedent to sexual dysfunction, particularly when hormone replacement is contraindicated because the malignancy is hormonally sensitive.[2]

Unlike many other physiological side effects of cancer treatment, sexual problems do not tend to resolve within the first year or two of disease-free survival;[2,7,15-19] rather, they may remain constant and fairly severe or even continue to increase. Although it is unclear how much sexual problems influence a survivor’s rating of overall health-related quality of life, these problems are clearly bothersome to many patients and interfere with a return to normal posttreatment life. Assessment, referral, intervention, and follow-up are important for maximizing quality of life and survival.[2,17]

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

In a qualitative study of 48 men (130 approached) with erectile dysfunction after treatment for early prostate cancer,[20] quality of life was significantly affected in areas such as the following:

- The quality of sexual intimacy.
- Everyday interactions with women.
- Sexual fantasy life.
- Perceptions of their masculinity.

Patients who participated in a randomized trial that compared radical prostatectomy with watchful waiting were asked to complete a questionnaire regarding symptoms, psychological functioning, and quality of life.[21] Although the frequency of sexual thoughts was similar in both groups, the prevalence of erectile dysfunction (changes in voluntary erection in sexual situations, erection on awakening, and spontaneous erections) was higher in the radical prostatectomy group (80%) than in the watchful-waiting group (45%). Among men who underwent radical prostatectomy, 56% were moderately or greatly distressed by the decline in sexual function, as compared with 40% of men in the watchful-waiting group.[21]

In a different population—that of male lymphoma survivors—a cross-sectional study of 15-year survivors of both Hodgkin and non-Hodgkin lymphoma compared sexual function and hormone levels with those of age-matched controls.[22] Overall, the authors concluded that sexual function (as measured by the Brief Sexual Function Inventory [BSFI]) was significantly worse in the lymphoma survivors than in controls. In univariate analysis, lower functioning was attributed to the following:

- Increased age.
- Lower testosterone.
- Higher luteinizing hormone.
- Greater fatigue and emotional distress.
- At least one comorbidity.

There are several cautions in interpreting these results:

- The types of comorbidities are not listed; hence, it is not known whether cardiovascular disease was prevalent.
- Multivariate analyses to look at the relative impact of the various contributing factors to lower functioning were not performed.
- Considering the overall mean scores, the BSFI subscale scores were neither that low nor that different from the scores of controls (a difference of <0.5) even though they were statistically significantly different, likely because of the large sample size.

Although the authors concluded that sexual function was worse, it was only slightly worse; however, it reached statistical significance. Therefore, it is not clear from this study how much sexual functioning contributed to distress or decreased quality of life.[22]

### References

Derogatis LR, Kourlesis SM: An approach to evaluation of sexual problems in the cancer patient. CA Cancer J Clin 31 (1): 46-50, 1981 Jan-Feb.6780146 81111424
Ganz PA, Rowland JH, Desmond K, et al.: Life after breast cancer: understanding women's health-related quality of life and sexual functioning. J Clin Oncol 16 (2): 501-14, 1998.9469334 98129236
Schover LR, Montague DK, Lakin MM: Sexual problems. In: DeVita VT Jr, Hellman S, Rosenberg SA, eds.: Cancer: Principles and Practice of Oncology. 5th ed. Philadelphia, Pa: Lippincott-Raven Publishers, 1997, pp 2857-2872.
Andersen BL: Quality of life for women with gynecologic cancer. Curr Opin Obstet Gynecol 7 (1): 69-76, 1995.7742520 95261022
Walsh PC, Epstein JI, Lowe FC: Potency following radical prostatectomy with wide unilateral excision of the neurovascular bundle. J Urol 138 (4): 823-7, 1987.3656538 88011471
Talcott JA, Rieker P, Clark JA, et al.: Patient-reported symptoms after primary therapy for early prostate cancer: results of a prospective cohort study. J Clin Oncol 16 (1): 275-83, 1998.9440753 98101703
Smith DS, Carvalhal GF, Schneider K, et al.: Quality-of-life outcomes for men with prostate carcinoma detected by screening. Cancer 88 (6): 1454-63, 2000.10717630 20183530
Stanford JL, Feng Z, Hamilton AS, et al.: Urinary and sexual function after radical prostatectomy for clinically localized prostate cancer: the Prostate Cancer Outcomes Study. JAMA 283 (3): 354-60, 2000.10647798 20112324
Robinson JW, Moritz S, Fung T: Meta-analysis of rates of erectile function after treatment of localized prostate carcinoma. Int J Radiat Oncol Biol Phys 54 (4): 1063-8, 2002.12419432 22307220
Arai Y, Kawakita M, Okada Y, et al.: Sexuality and fertility in long-term survivors of testicular cancer. J Clin Oncol 15 (4): 1444-8, 1997.9193338 97336591
Roth AJ, Carter J, Nelson CJ: Sexuality after cancer. In: Holland JC, Breitbart WS, Jacobsen PB, et al., eds.: Psycho-oncology. 2nd ed. New York, NY: Oxford University Press, Inc., 2010, pp 245-50.
Lamb MA: Sexuality and Sexual Functioning. In: McCorkle R, Grant M, Frank-Stromborg M, et al., eds.: Cancer Nursing: A Comprehensive Textbook. 2nd ed. Philadelphia, Pa: WB Saunders Co, 1996, pp 1105-1127.
Ofman US, Auchincloss SS: Sexual dysfunction in cancer patients. Curr Opin Oncol 4 (4): 605-13, 1992.1511017 92379112
Havenga K, Maas CP, DeRuiter MC, et al.: Avoiding long-term disturbance to bladder and sexual function in pelvic surgery, particularly with rectal cancer. Semin Surg Oncol 18 (3): 235-43, 2000 Apr-May.10757889 20221621
Fosså SD, Woehre H, Kurth KH, et al.: Influence of urological morbidity on quality of life in patients with prostate cancer. Eur Urol 31 (Suppl 3): 3-8, 1997.9101208 97255877
Helgason AR, Adolfsson J, Dickman P, et al.: Factors associated with waning sexual function among elderly men and prostate cancer patients. J Urol 158 (1): 155-9, 1997.9186344 97329885
Litwin MS, Hays RD, Fink A, et al.: Quality-of-life outcomes in men treated for localized prostate cancer. JAMA 273 (2): 129-35, 1995.7799493 95097448
Relander T, Cavallin-Ståhl E, Garwicz S, et al.: Gonadal and sexual function in men treated for childhood cancer. Med Pediatr Oncol 35 (1): 52-63, 2000.10881008 20342042
Broeckel JA, Thors CL, Jacobsen PB, et al.: Sexual functioning in long-term breast cancer survivors treated with adjuvant chemotherapy. Breast Cancer Res Treat 75 (3): 241-8, 2002.12353813 22240805
Bokhour BG, Clark JA, Inui TS, et al.: Sexuality after treatment for early prostate cancer: exploring the meanings of "erectile dysfunction". J Gen Intern Med 16 (10): 649-55, 2001.11679031 21536963
Steineck G, Helgesen F, Adolfsson J, et al.: Quality of life after radical prostatectomy or watchful waiting. N Engl J Med 347 (11): 790-6, 2002.12226149 22213858
Kiserud CE, Schover LR, Dahl AA, et al.: Do male lymphoma survivors have impaired sexual function? J Clin Oncol 27 (35): 6019-26, 2009.19858388

## Factors Affecting Sexual Function in People With Cancer

Sexual dysfunction may be multifactorial; both physical and psychological factors contribute to its development. Physical factors include the following:

- Functional damage secondary to cancer therapies.
- Fatigue.
- Pain.

In addition, cancer therapies such as surgery, chemotherapy, radiation therapy, and bone marrow transplantation may have a direct physiologic impact on sexual function.[1] Medications used to treat pain, depression, and other symptoms may contribute to sexual dysfunction.

Psychological factors include the following:[2,3]

- Misbeliefs about the origin of the cancer.
- Guilt related to these misbeliefs.
- Coexisting depression.
- Changes in body image after surgery.
- Stresses to personal relationships that occur secondary to cancer.

Increasing age is often believed to be associated with decreased sexual desire and performance; however, in one study, elderly men reported that sex remains important to their quality of life, that performance can be maintained into the 70s and 80s, and that altered sexual function is distressing.[4]

### Treatment-related Factors Secondary to Surgery

A number of cancer treatments have a direct physiologic impact on sexual function. As treatment success has improved for some sites, attempts have been made to modify treatment to reduce sexual morbidity. Several predictors of postoperative sexual functioning include the following:

- Patient’s age.
- Premorbid sexual and bladder functioning.
- Tumor location.
- Tumor size.
- Extent of surgical resection.

#### Breast cancer

Sexual function after localized treatment for breast cancer has been the subject of a good deal of research. Several reviews concur that breast conservation or reconstruction have only a minor impact in preserving sexual function compared with a mastectomy alone.[5,6] Women who have breast conservation, in particular, are more likely to continue to enjoy breast caressing, but groups typically do not differ on less subtle variables such as the frequency of sex, ease of reaching orgasm, or overall sexual satisfaction.

A cross-sectional survey of younger women (aged 50 years or younger) with breast cancer found in multivariate analyses that having a mastectomy was associated with greater problems in interest in sex; chemotherapy was associated with greater sexual dysfunction.[7] Other studies confirm that sexual quality of life is disrupted more among those receiving chemotherapy, those who have undergone total mastectomies, those whose cancers were detected at later stages, and those with more depressive symptoms near the time of diagnosis.[8] A large survey of women with breast cancer who were being treated with either adjuvant tamoxifen or adjuvant exemestane (an aromatase inhibitor) was conducted to evaluate the differences in menopausal symptoms associated with these two agents. After 1 year of use, exemestane was associated with fewer hot flashes and less vaginal discharge than tamoxifen but with more vaginal dryness, bone pain, and sleep disorders.[9]

Few studies evaluate sexuality in women with breast cancer that recurs. One longitudinal study compared women who were recently diagnosed with recurrent cancer with matched patients who were disease free. The recurrence group had less frequent intercourse, although there were no differences in sexual or relationship satisfaction. As noted in other studies of women with breast cancer, sexual changes were more common among younger patients.[10]

#### Colorectal cancer

Changes related to sexual functioning in men and women with colorectal cancer have not been well studied, and there is scant literature to illuminate the issues and provide understanding and effective solutions. There are, however, potential changes in sexual function that can result from commonly performed surgery, particularly surgery performed on people with rectal cancer. This section will describe the possible effects on male sexual function that can occur after rectal cancer surgery.

Sexual and urinary dysfunctions are recognized complications of resection for rectal cancer. The main cause of sexual dysfunction from surgical resection appears to be injury to the autonomic nerves in the pelvis along the distal aorta from blunt pelvic resection or undefined cutting. Incidence of genitourinary dysfunction depends on the type of surgery performed (i.e., the plane of dissection, the degree of preservation of the autonomic nerves, and the extent of pelvic dissection).[11,12] Nerve injury can occur via direct injury, by vascular damage to the vasa nervosa, or where the blood supply to the nerves that enter laterally is disrupted with traction or devascularization.[13]

The neuroanatomy for sexual functioning requires an intact autonomic nervous system, which includes an interaction between the parasympathetic and sympathetic nervous systems. Erection (parasympathetic-mediated response) is governed by impulses traveling along the nervi erigentes that arise from the second, third, and fourth sacral nerves,[14] whereas ejaculation depends on sympathetic control. The sympathetic fibers originate from the lower thoracic and upper lumbar segments of the spinal cord. These fibers descend along the aorta, forming the superior hypogastric plexus near the aortic bifurcation. The plexus divides into two trunks, which enter the pelvis along its lateral walls as the hypogastric nerves. The parasympathetic fibers to the pelvis join the hypogastric nerves on each pelvic wall to form the pelvic plexuses.[14] One study provided a more extensive review of the anatomy of the pelvic autonomic nerves and the relation of these nerves to the mesorectal fascial planes.[15] Damage to the hypogastric (sympathetic) nerves or sacral splanchnic (parasympathetic) nerves, or both, during surgical resection are the most likely cause of urinary and sexual dysfunction.[16] Pelvic plexus preservation is necessary to maintain erectile functioning, and both hypogastric nerve and pelvic plexus preservation are necessary to maintain ejaculate function and orgasm.[17]

#### Prostate cancer

There is controversy about whether the newer nerve-sparing technique for radical prostatectomy (RP) is more successful in preserving erectile function than definitive radiation therapy for localized prostate cancer. A 1994 survey of practice patterns found that 95% of randomly-sampled urologists considered surgery the treatment of choice for clinically localized prostate cancer in men younger than 70 years.[18] As follow-up studies of large groups of men undergoing RP have accumulated, estimates of the number who recover functional erections (firm enough to allow penile-vaginal penetration on most occasions) range from 10% to 40%, with estimates of functional erections following external-beam radiation therapy (EBRT) ranging from 15% to 33%.[19-23] Retrospective cohort studies have provided evidence indicating superior potency results with bilateral nerve-sparing surgical techniques.[24,25] One research group suggested that much of the superiority of nerve-sparing over standard surgical technique in preserving potency is an artifact of selection bias.[26] The men selected to receive nerve-sparing surgery are those with the best potential to recover adequate erections. A systematic literature review using MEDLINE and CANCERLIT from January 1997 to June 2003 concluded that patient selection and surgical technique are the major determinants of postoperative erectile function in patients receiving treatment for localized prostate cancer. For properly selected patients undergoing a nerve-sparing RP by an experienced surgeon, unassisted or medically assisted erections postoperatively should be achieved.[27]

Other studies suggest that 3-dimensional conformal radiation therapy may be superior to RP in preserving erectile function.[20,28-33] Rates of potency are typically in the 30% to 60% range, with conformal therapy superior to older techniques.[20,34-36]

Men who are older and in poor health, however, are often directed into radiation therapy, so that researchers often report posttreatment sexual function only for the subgroup that began with good erections. Furthermore, long-term follow-up is needed in comparing surgery with radiation therapy because recovery of erectile function typically occurs within a year or so after RP, whereas the damaging impact of radiation on erectile function is slow and gradual, with declines still being observed as long as 2 or 3 years after treatment. A retrospective cohort study of men treated with either RP or EBRT revealed significantly greater prevalence of erectile dysfunction in the surgery group at 5 years after diagnosis (79.3% vs. 63.5%).[37]

The mechanism of injury to erectile function also differs between surgery and radiation therapy.

- RP damages nerves that direct blood flow into the penis, ultimately decreasing oxygenation of these tissues and increasing collagen deposits that interfere with the penile tissue relaxation essential for firm erection.[38]
- Radiation therapy appears to damage the arterial system that transports blood to the penis.[39]

A retrospective review of population-based data suggests that the choice of primary treatment for prostate cancer is not associated with 2-year general health-related quality-of-life outcomes.[40]

Prostate brachytherapy with permanent radioactive implants is an increasingly popular choice for the treatment of prostate cancer.[41]

Two isotopes commonly used are:

- Iodine 125 (^125^I).
- Palladium 103 (^103^Pd).

With brachytherapy, ejaculation is preserved and age (91% of men younger than 50 years) correlates with return of sexual function.[42] However, a decline in potency as a function of time following treatment is expected in patients treated with brachytherapy.[41,43] One study found an actuarial preservation of potency after brachytherapy alone of 79% at 3 years and 59% at 6 years.[44] Another study found lower rates, with 57% of men fully potent or with mild erectile dysfunction at baseline and at 30 months postbrachytherapy.[45]

Potency rates after brachytherapy are significantly influenced by the addition of EBRT and/or neoadjuvant hormonal deprivation. Patients who received brachytherapy alone had a 5-year potency rate of 76%, compared with a potency rate of 56% for those treated with brachytherapy and EBRT. Patients who received a combination of EBRT, neoadjuvant hormonal deprivation, and brachytherapy had a 5-year potency rate of 29%.[41]

The etiology of erectile dysfunction following brachytherapy is unknown; however, radiation damage to nerve bundles and vascular structures has been proposed as a cause.[41] One study investigated retrospectively the relationships between the dose of radiation to structures putatively involved in prostate brachytherapy–induced erectile dysfunction and incidence of postbrachytherapy erectile dysfunction. This study found no increased risk of erectile dysfunction with increasing dose to the crus or neurovascular bundle, proposing a possible dose-response relationship between the risk of erectile dysfunction and radiation dose to the bulb.[46]

##### Orgasm alterations

Despite advances in our understanding of the erectile mechanism, the orgasm process remains poorly understood. Although orgasm alterations receive little attention, they are not uncommon and can be categorized into three areas:

- Changes in orgasm.
- Orgasmic pain (dysorgasmia).
- Orgasm-associated incontinence.

A study of 1,236 men treated for localized prostate cancer (52% RP, 48% radiation therapy) found that 65% of patients reported a problem with their orgasms, including 31% who no longer tried to reach orgasm, 17% who tried but were unable to reach orgasm, and 28% with orgasms that were disappointingly weak.[47]

To define the type of orgasmic dysfunction in men after RP, one group of investigators used a survey, including questions addressing the following:[48]

- Presence of orgasm.
- Absence of orgasm.
- Orgasm quality before surgery.
- Orgasm quality after surgery.
- Presence of orgasmic pain.
- Location of orgasmic pain.
- Consistency and duration of orgasmic pain.

Of the patients treated surgically:

- 22% reported no change in orgasm intensity.
- 37% reported a complete absence of orgasm.
- 37% had a decreased orgasm intensity.
- 4% reported a more intense orgasm after RP than before.

Pain during orgasm occurred in 14% of the patients, located in the penis (63%), abdomen (9%), rectum (24%), and other areas (4%). Most patients had orgasm-associated pain for less than a minute, one-third reported pain for 1 to 5 minutes, and 12% reported pain lasting more than 5 minutes.[48] No consensus on the etiology of orgasmic pain exists; however, it is thought that bladder neck/pelvic floor spasm plays a role.

###### Tamsulosin

A prospective, non–placebo-controlled study was conducted to assess the use of tamsulosin, an alpha-adrenergic blocking agent, in patients with orgasmic pain. In this study, 77% of patients reported significant improvement in pain, and 12% noted complete resolution of their pain with significant increase in International Index of Erectile Function libido score, supporting the hypothesis that orgasmic pain is related to bladder neck and/or pelvic floor muscle spasm.[49]

###### Climacturia

Urinary incontinence during orgasm (climacturia) is another phenomenon that may adversely affect satisfaction with sexual activity for men post-RP and for their partners. One group of investigators reported that climacturia occurred in 20% of patients after RP and that it was unrelated to the type of prostatectomy performed (open or laparoscopic).[50] Another group reported a higher prevalence of post-RP climacturia at 45%.[51] In 68% of the cases reported, climacturia occurred rarely or only occasionally, while in 21% of cases it occurred most of the time or always. Urine leakage amounted to only a few drops in 58% of patients, but 16% reported a loss of more than 1 oz. Bother was none or minimal in 52% of patients and significant in 48%.

There is no effective treatment to restore the nature of preoperative orgasm. Dysorgasmia can be managed symptomatically with alpha-blockers, and climacturia may be managed behaviorally (restricting fluid intake and emptying the bladder before sexual activity) or mechanically (using a rubber constriction ring or condoms, if the leakage amount is small).

##### Penile length alterations

One study has found a significant decrease in all penile dimensions after RP: decreased penile length of 8% and 9% and decreased volume of 19% to 22% in the flaccid and erect states, respectively.[52] The most substantial change occurred between the first 4 months and 8 months postsurgery. A measured decrement in penile length was found in 71% of men after RP, which was more than 1 cm in 48% of patients at 3 months postsurgery.[53] Similar findings were obtained in another study, with a decrease in the stretched penile length in 68% of patients and more than 15% decrease in 19% of patients.[54] Penile length shortening has been shown to be independently associated with nerve preservation status and with postoperative erectile function outcome.

###### Anatomical fibrotic changes

Anatomical fibrotic changes that showed significantly decreased elastic fibers and smooth muscle fiber content and increased collagen content have been demonstrated in comparisons of penile biopsies preoperatively and at 2 months and 12 months postoperatively. It is thought that the chronic absence of erectile activity leads to a state of cavernosal hypoxia, low oxygen tension, which favors the secretion of fibrogenic cytokines such as transforming growth factor-beta 1 (TGF-beta 1), while during erection the corporal smooth muscle is oxygenated. This results in the secretion of endogenous prostanoids (prostaglandin E1) which, in turn, inhibit fibrogenic cytokine production.

###### Physiological-functional alterations

In addition to anatomical changes, there are also physiological-functional alterations. It is well recognized that even in the hands of an experienced surgeon using nerve-sparing surgery, some degree of nerve injury is likely to occur to the cavernosal nerves. Sympathetic hyperinnervation (termed by some competitive sprouting) refers to the concept that when autonomic nerves are injured, sympathetic fibers are biologically primed to recuperate from injury and regenerate more quickly, resulting in unantagonized sympathetic tone in the end organ. After cavernosal nerve injury, this phenomenon results in a penile hypertonic state. Any factors that result in reduced nitric oxide secretion or increased sympathetic tone, such as nerve injury after RP, may lead to decreased relaxation or distensibility of corporal smooth muscle and may lead to shortening.

Regardless of the exact mechanism of penile length alteration, the common underlying mechanism of penile shortening and long-term erectile dysfunction may be structural changes that result from a combination of neural injury–associated denervation resulting in smooth muscle degeneration and cavernosal hypoxia-induced collagen deposition.

Penile length changes can be divided into early and delayed:

- Early changes. Early changes occur in response to the neural injury during RP. The cavernosal nerves degenerate, and in the early phase—when sympathetic nerve function is in the ascendancy—the penis is contracted. Given that the penile smooth muscle is highly contractile in response to adrenergic tone, this results in a penis that patients often refer to as “being drawn back in the body.” This hypertonic state is most pronounced within the first 3 months to 6 months postsurgery. A clinical scenario supporting this is the circumcised man whose penis, soon after surgery, appears incompletely circumcised or even uncircumcised.
- Delayed structural changes. Delayed structural changes are more distressing to the patient, resulting from true irreversible structural alterations in the corporal smooth muscle. These structural changes most probably result from a combination of factors (as described above). The difference between these changes and early increased tone is shown by the reduced or absent penile stretch in the group with permanent smooth muscle alterations. It is easy to appreciate how these alterations affect not only length but also girth.

#### Testicular cancer

Men diagnosed with testicular cancer find changes in sexual function particularly worrisome. However, limited published data describing long-term sexual function in men postorchiectomy are encouraging. A Dutch study reported a decline in sexual function, including desire, during the first 3 months postsurgery, with function improving beyond baseline at 12 months.[55] In this study, being single was the main predictor of worse sexual functioning and/or less satisfaction with functioning at all time points. The type of treatment (orchiectomy alone vs. orchiectomy plus chemotherapy or radiation therapy) had no effect on sexual function. Depression was predictive at baseline and at 3 months but not at 12 months.[55]

A French case-control study evaluated sexual outcomes in 106 men with testicular cancer who were 5 years postdiagnosis and disease free.[56] The control group was matched by age and geographic location. Both testicular cancer survivors and controls had equal rates of marriage, divorce, and separation. There was, however, a significant difference between survivors and controls with regard to sexual enjoyment, desire (P = .04), infertility (P < .001), and erectile dysfunction (P = .05). Loss of sexual activity and reduction of sexual intercourse did not differ between groups.[56]

Similarly, a Norwegian study of more than 1,000 men with histories of testicular cancer (diagnosed and treated 4–18 years previously) found statistically significant differences on the Brief Male Sexual Function Inventory in the areas of erection, ejaculation, and desire in both younger men (aged 20–39 years) and older men (aged 40–59 years), compared with men of similar ages in the general population.[57] However, in contrast, the authors report that these statistically significant differences were small and not clinically meaningful. Men who received chemotherapy in addition to retroperitoneal lymph node dissection reported more trouble with ejaculation but no trouble in other sexual domains. As in the Dutch study described above, being single was the most important variable with respect to sexual problems. In addition, increasing age was associated with worse sexual scores in this study.[57]

In summary, data suggest that although men with testicular cancer may report more problems with some aspects of sexual function, negative changes are mostly short term, with long-term function and activity being comparable to function and activity in the general population.

#### Other pelvic tumors

Nerve-sparing approaches to surgery appear to enhance recovery of erections at least to some degree after radical cystectomy [58,59] and colorectal surgery.[59,60] Although the sexual side effects of definitive radiation therapy for pelvic malignancies other than prostate cancer have not been well researched, outcomes similar to those after prostate cancer treatment would be expected when the dosage and field affect the pelvic vascular bed.

Pelvic surgeries in women include hysterectomy/oophorectomy, cystectomy, vulvectomy, and abdominoperineal resection and often involve removal of a portion of the vagina or other parts of the female genital anatomy. Older studies indicated that few women reported dyspareunia or loss of orgasmic capacity after radical hysterectomy;[61,62] however, a newer prospective study of women with early-stage cervical carcinoma who had undergone radical hysterectomy compared with control women reported severe orgasmic problems and uncomfortable sexual intercourse due to reduced vaginal size during the first 6 months after surgery. Throughout the first 2 years after surgery, the women reported persistent lack of sexual interest and lubrication.[63]

Radical cystectomy for bladder cancer is more often associated with pain from reduced vaginal depth and caliber resulting from resection of the entire anterior vaginal wall. These patients may resume pain-free intercourse, normal sensation, and orgasm with the help of counseling, hormone therapy, and use of vaginal dilators.[64] Conservation of vaginal tissue may reduce some of these problems. Decreased morbidity has been reported from sparing of vulvar tissue with a partial vulvectomy versus radical vulvectomy, yet the amount of tissue resected has not been a good predictor of postoperative sexual satisfaction.[65] Rather, it is the quality of a woman’s relationship with her partner that correlates with sexual function.[66] Women who undergo abdominoperineal resection may also report pain with intercourse related to loss of cushioning from removal of the posterior vaginal wall. In addition, pelvic adhesions or scarring may contribute to dyspareunia after an anterior/posterior resection. Radical resection of recurrent pelvic tumors in women (pelvic exenteration) involves partial or complete removal of the vagina and levator muscles. Vaginal reconstruction produces satisfactory function and aesthetic results in some patients.[67]

### Treatment-related Factors Secondary to Systemic Chemotherapy

Chemotherapy is associated with loss of desire and decreased frequency of intercourse for both men and women. Common side effects experienced after chemotherapy include the following:

- Nausea.
- Vomiting.
- Diarrhea.
- Constipation.
- Mucositis.
- Weight changes (gain or loss).
- Altered sense of taste and smell.

These symptoms often leave individuals feeling asexual. Alopecia is often one of the most distressing side effects with associated changes in body image.[68] Loss of pubic hair can also be particularly uncomfortable, which, in turn, promotes asexual feelings.

For women, cytotoxic agents are associated with the following:[3,69-71]

- Vaginal dryness.
- Dyspareunia.
- Reduced ability to reach orgasm.
- Greater risk of ovarian cancer for older women.

Premature ovarian failure secondary to chemotherapy or radiation brings the sudden onset of menopausal symptoms, and women who experience sudden loss of estrogen from the ovaries experience a number of associated sexual changes. Sexual symptoms associated with estrogen deprivation include the following:[72]

- Vaginal atrophy.
- Thinning of the vulvar tissues and vagina.
- Loss of tissue elasticity.
- Decreased vaginal lubrication.
- Hot flashes.
- Increased frequency of urinary tract infections.
- Mood swings.
- Fatigue.
- Irritability.

In addition, for younger women with breast cancer, menopausal symptoms as a result of therapy contribute to poorer health perception and quality of life.[72]

A study of the psychosocial aspects of the transitional period between the end of primary breast cancer treatment and survivorship enrolled 558 women. They were treated with surgery (either mastectomy or lumpectomy) with and without chemotherapy, and the health outcomes examined included physical, emotional, and sexual functioning, as well as mood and symptoms. Sexual functioning was worse for women who received chemotherapy, regardless of the type of prior surgery (i.e., mastectomy or lumpectomy). These problems with sexual function were likely related to problems with vaginal lubrication and a change in menopausal status, both of which are more common in those receiving chemotherapy.[73] Because of concerns over causing recurrence of breast cancer, hormone replacement therapy is often not recommended for women who have become menopausal during treatment.[74]

In women with malignancies of other types, however, estrogen replacement therapy can usually reverse many sexual problems. Providers may discuss with women the risks and benefits of hormone replacement therapy with consideration of each women’s individual risk profile. The impact of menopause on sexual functioning and the arousal phase of the sexual response in particular are often not communicated to women who struggle to understand these changes in their sexual responsiveness. Women who have graft-versus-host disease (GVHD) after bone marrow transplantation may develop vaginal strictures and adhesions that interfere with intercourse.[75]

For men, chemotherapy agents rarely play an obvious role in erectile dysfunction.[3] Some cytotoxic agents may cause nerve damage, but few reports indicate permanent loss of erections upon completion of treatment. Sexual dysfunction, including loss of desire and erectile dysfunction, is more common after bone marrow transplant, often associated with autonomic neuropathy or GVHD.[76,77] Systemic chemotherapy in men occasionally interferes with testosterone production in the testicles.[78] For those men who have damage to the testicles from chemotherapy, testosterone replacement may be necessary to restore sexual function.[3] More rarely, neurotoxic chemotherapies have been observed to interfere with ejaculation of semen at orgasm, presumably because of damage to autonomic nerves involved in the contractions of the prostate, seminal vesicles, and bladder neck.[79]

### Treatment-related Factors Secondary to Radiation

Like chemotherapy, radiation can produce side effects such as fatigue, nausea and vomiting, diarrhea, and other symptoms that can reduce feelings of sexuality. In particular, pelvic radiation often irritates the intestinal lining and may cause diarrhea. The fatigue and change in bowel habits associated with radiation likely contribute to loss of libido and decreased sexual activity reported for both men and women.

For women, pelvic radiation also causes changes in the vagina. Both EBRT and implants damage the vaginal epithelium and basal layer of the mucosa, leading to vaginal stenosis and vascular fibrosis. These factors can then lead to the following:[80,81]

- Long-term sexual dysfunction.
- Painful pelvic examinations.
- Dyspareunia.
- Potential gonadal toxicity.
- Infertility.
- Low-birth-weight pregnancy outcomes in survivorship.

A longitudinal prospective study of sexual function and vaginal changes after radiation therapy for cervical cancer found persistent sexual dysfunction and adverse vaginal changes throughout the 2 years after radiation therapy during which the women were followed:[82]

- 85% had low or no sexual interest.
- 35% reported moderate to severe lack of lubrication.
- 55% had mild to severe dysfunction.
- 30% were dissatisfied with their sexual life.

Women who receive radiation may be educated regarding the use of vaginal dilators.

Vascular compromise can be temporary or permanent.[83] For men with rectal cancer, pelvic radiation has been associated with difficulties attaining or maintaining erection.[84,85] The exact etiology of sexual dysfunction after radiation therapy remains unknown [13] but likely relates to arterial damage of the penile arteries, limiting blood flow needed for successful erection.[39] Proposed etiologies include pudendal or sympathetic nerve injury, vascular occlusion of penile arteries, or decreased levels of testosterone. Often, sexual changes are insidious, with changes occurring from 6 months to 1 year after radiation as fibrosis develops.

There is a greater risk of sexual morbidity in men who already have compromised quality of erections before cancer diagnosis. Other risk factors that contribute to greater risk of sexual morbidity include:[86]

- Cigarette smoking.
- History of heart disease.
- Hypertension.
- Pretreatment potency.
- Diabetes.

### Treatment-related Factors Secondary to Hormone Therapy

Hormone therapy for prostate cancer involves reducing circulating androgens as close to zero as possible. Because androgens also act in the brain to promote sexual desire, about 80% of men report a profound decrease in sexual interest, typically accompanied by erectile dysfunction and difficulty reaching orgasm.[87-90] Younger men, however, are sometimes able to continue adequate sexual function. With an increasing number of younger men diagnosed with asymptomatic but advanced prostate cancer found through prostate specific antigen (PSA) screening, more attention has been given to preventing some of the sexual morbidity of treatment. Some centers have experimented with the following:

- Delaying hormone therapy until the onset of symptoms.[91]
- Giving intermittent hormone therapy as needed to suppress PSA.[92]
- Using a combination of finasteride and an androgen-receptor blocker instead of hormone treatments that totally eliminate androgen production.[93]

It is not yet clear, however, whether men who try these modified treatment regimens are compromising the length of their survival.

#### Tamoxifen

Tamoxifen for breast cancer, described as an antiestrogenic drug, actually acts like a weak estrogen in the genital tract.[94] The medication has anecdotally been reported to be associated with vaginal dryness and excessive vaginal lubrication, soreness, as well as occasional decrease in sexual desire and orgasmic delay.[95,96]

Adjuvant tamoxifen therapy can increase the rate of hot flashes, night sweats, and vaginal discharge by approximately 10% in women older than 45 years. Furthermore, though rates of sexual activity with a partner did not decline, women taking tamoxifen reported slightly increased rates of difficulty with sexual arousal and achieving orgasm.[96,97]

The results of the few studies to examine women’s actual sexual function while taking tamoxifen are not conclusive or easily compared because each study utilized different measures and statistical analyses. One study found no difference in reported sexual problems among women taking tamoxifen and women who received no systemic therapy, when adjusted for age.[6] Another study similarly found no significant effect of tamoxifen on sexual functioning utilizing a different measure and examining the effect only in women aged 50 years and older.[74] A third study found that use of tamoxifen did not make a significant independent contribution to the prediction of impact on sexuality.[98]

Results from a study with a limited sample size of women taking tamoxifen, however, noted a differential estrogen effect by age, such that an estrogen effect was seen on the vaginal smears of 34 of 49 participants and was more common in older patients (P = .054). The presence of an estrogen effect was correlated with negative reactions during sex (P = .02) and vaginal dryness or tightness (P = .046). This study raised the possibility that tamoxifen may have antagonist effects on the vagina of younger women and estrogen agonist effects on postmenopausal women.[99] Prospective study of sexual functioning with evaluation of physiologic status (e.g., vaginal mucosa and hormone levels) before and after introduction of systemic therapy continues to be warranted. The impact of tamoxifen on sexuality and mood is still not clearly understood.

### Psychological Factors

Loss of interest in sex is likely to be secondary to psychological factors.

Misbeliefs: It is not uncommon for both men and women to believe, though incorrectly, that past sexual activity, an extramarital affair, sexually transmitted disease, or abortion has caused their cancer. Some believe, again incorrectly, that sexual activity may promote a recurrence of their tumor. This misbelief is especially common in individuals with a malignancy of the pelvic or genital area. These individuals may need reassurance that cancer is not transmissible via sexual contact. Women with squamous cell carcinoma of the cervix have often read or been told that this cancer is associated with the sexually transmitted human papillomavirus.[100] Guilt about past sexual activity or concern about potential harm to a partner are issues to be addressed in these patients. The health care provider can clarify that it is the virus and not the cancer that is transmissible through sexual contact.

Depression: Loss of sexual desire or a decrease in sexual pleasure is a common symptom of depression. Depression is 15% to 25% more prevalent in patients with cancer than in the healthy population;[101] therefore, an assessment to rule out depression is an important part of evaluating sexual dysfunction. Sometimes people present with complaints of sexual dysfunction, feeling less stigmatized having a physical medical problem than they do by acknowledging that they are depressed. Treating depression can be helpful in alleviating sexual dysfunction. Attention should be paid to the sexual side effects of antidepressants in clinical decision making. (Refer to the PDQ summary on Depression for more information.)

Body image: Changes in body image may interfere with sexual desire in some cancer survivors, but the impact of disfiguring cancer treatments, such as mastectomy, has been exaggerated. For example, breast conservation may result in better self-rated physical attractiveness in women compared with mastectomy alone, but these groups of women do not differ in their sexual activity or satisfaction. On the other hand, weight gain after chemotherapy for breast cancer may be underestimated as a factor that decreases a woman’s feelings of attractiveness.[102] Having an ostomy for elimination of stool or urine can also affect a man’s or woman’s sense of being sexually attractive. Specific coping strategies have been suggested to overcome these problems.[103]

One study attempted to explore the relationships between several relevant factors that can affect sexual function in 175 women with gynecologic cancer.[104] These factors included the following:

- Body image.
- Mood.
- Vaginal changes.
- Fatigue.
- Partner sexual function.
- Physical symptoms.
- General demographics such as socioeconomic status.

After controlling for sociodemographic factors, the authors concluded that physical symptoms/health status, partner function, and sexual self-image (called sexual self-schema) contributed significantly to sexual behavior, responsiveness, and satisfaction. In fact, the authors found that sexual self-schema actually served as a buffer between lack of sexual satisfaction and mood—that is, women with a more positive sexual self-image had fewer depressed symptoms when their sexual satisfaction was poor. Therefore, interventions that target cognitive representations may improve certain outcomes related to sexual health and functioning.[104]

The stress of cancer diagnosis and ongoing therapy can exacerbate underlying marital tensions. This can likewise affect the sexual relationship. Men or women who do not have a committed relationship also have to face the potential trauma of being rejected by a new partner who learns about his or her history of cancer.[3] Some avoid all dating relationships out of fear of such rejection. One premorbid personality factor that may play a role in whether a man or woman stays sexually active after cancer is the sexual self-schema (i.e., whether an individual regards his or her own sexuality in a positive light). Women with negative sexual self-schemas were less likely to resume sex or have good sexual function after treatment for gynecological cancer.[105] One of the most important factors in adjusting after cancer is the person’s feelings about his or her sexuality before cancer. That does not mean, however, that this is not a good opportunity to help a person explore those issues.

### Pediatric Cancer Survivors

A cross-sectional survey of 599 survivors of pediatric cancer from three U.S. institutions in Southern California and the Midwest was conducted.[106] Types of cancer included the following:

- Leukemia (38%).
- Hodgkin/non-Hodgkin lymphoma (25%).
- Central nervous system/brain tumor (13%).
- Solid and soft tissue tumors (12%).
- Wilms tumor (4%).

Respondents had to be 21 years of age or younger at diagnosis and had to be 18 to 39 years of age at the time of the study. The mean age at diagnosis for the sample was 11 years, and the mean number of years since diagnosis was 16. The mean age of the sample was 27 years. Overall, 52% of women and 32% of men reported some problems in sexual functioning, with 43% citing at least one specific symptom. Erections were reported as being somewhat or very much of a problem by 8.5% of men. Becoming sexually aroused was reported as being somewhat or very much of a problem by 17% of women and 7% of men, and a lack of interest was reported by 19% of women and 10% of men. Emotional and physical comorbidities were more strongly associated with problems in sexual functioning.

Predictors of sexual problems in women included being married and reporting health problems; in men, lower income and reporting health problems were significant predictors.[106] While more women reported problems with sexual symptoms, men reported more distress. Limitations of this study include that it was a cross-sectional survey subject to selection/response bias. Results of this study cannot directly link sexual sequelae to a cancer diagnosis or to cancer treatment. However, particularly for men, the extent of sexual dysfunction reported is not generally seen in a cohort this young.

### References

Watson M, Wheatley K, Harrison GA, et al.: Severe adverse impact on sexual functioning and fertility of bone marrow transplantation, either allogeneic or autologous, compared with consolidation chemotherapy alone: analysis of the MRC AML 10 trial. Cancer 86 (7): 1231-9, 1999.10506708 99438423
Schover LR, Montague DK, Lakin MM: Sexual problems. In: DeVita VT Jr, Hellman S, Rosenberg SA, eds.: Cancer: Principles and Practice of Oncology. 5th ed. Philadelphia, Pa: Lippincott-Raven Publishers, 1997, pp 2857-2872.
Schover LR: Sexuality and Fertility After Cancer. New York, NY: John Wiley and Sons, 1997.
Helgason AR, Adolfsson J, Dickman P, et al.: Sexual desire, erection, orgasm and ejaculatory functions and their importance to elderly Swedish men: a population-based study. Age Ageing 25 (4): 285-91, 1996.8831873 96428771
Schover LR: Sexuality and body image in younger women with breast cancer. J Natl Cancer Inst Monogr (16): 177-82, 1994.7999462 95092426
Schover LR, Yetman RJ, Tuason LJ, et al.: Partial mastectomy and breast reconstruction. A comparison of their effects on psychosocial adjustment, body image, and sexuality. Cancer 75 (1): 54-64, 1995.7804978 95103468
Avis NE, Crawford S, Manuel J: Psychosocial problems among younger women with breast cancer. Psychooncology 13 (5): 295-308, 2004.15133771
Beckjord E, Campas BE: Sexual quality of life in women with newly diagnosed breast cancer. J Psychosoc Oncol 25 (2): 19-36, 2007.17613483
Jones SE, Cantrell J, Vukelja S, et al.: Comparison of menopausal symptoms during the first year of adjuvant therapy with either exemestane or tamoxifen in early breast cancer: report of a Tamoxifen Exemestane Adjuvant Multicenter trial substudy. J Clin Oncol 25 (30): 4765-71, 2007.17947724
Andersen BL, Carpenter KM, Yang HC, et al.: Sexual well-being among partnered women with breast cancer recurrence. J Clin Oncol 25 (21): 3151-7, 2007.17634495
Nesbakken A, Nygaard K, Bull-Njaa T, et al.: Bladder and sexual dysfunction after mesorectal excision for rectal cancer. Br J Surg 87 (2): 206-10, 2000.10671929 20137848
Quah HM, Jayne DG, Eu KW, et al.: Bladder and sexual dysfunction following laparoscopically assisted and conventional open mesorectal resection for cancer. Br J Surg 89 (12): 1551-6, 2002.12445065 22335164
Chorost MI, Weber TK, Lee RJ, et al.: Sexual dysfunction, informed consent and multimodality therapy for rectal cancer. Am J Surg 179 (4): 271-4, 2000.10875984 20336395
Yeager ES, Van Heerden JA: Sexual dysfunction following proctocolectomy and abdominoperineal resection. Ann Surg 191 (2): 169-70, 1980.7362286 80152378
Havenga K, Maas CP, DeRuiter MC, et al.: Avoiding long-term disturbance to bladder and sexual function in pelvic surgery, particularly with rectal cancer. Semin Surg Oncol 18 (3): 235-43, 2000 Apr-May.10757889 20221621
Havenga K, Enker WE, McDermott K, et al.: Male and female sexual and urinary function after total mesorectal excision with autonomic nerve preservation for carcinoma of the rectum. J Am Coll Surg 182 (6): 495-502, 1996.8646349 96242128
Masui H, Ike H, Yamaguchi S, et al.: Male sexual function after autonomic nerve-preserving operation for rectal cancer. Dis Colon Rectum 39 (10): 1140-5, 1996.8831531 96428428
Gee WF, Holtgrewe HL, Albertsen PC, et al.: Practice trends in the diagnosis and management of prostate cancer in the United States. J Urol 154 (1): 207-8, 1995.7539862 95295065
Walsh PC, Epstein JI, Lowe FC: Potency following radical prostatectomy with wide unilateral excision of the neurovascular bundle. J Urol 138 (4): 823-7, 1987.3656538 88011471
Talcott JA, Rieker P, Clark JA, et al.: Patient-reported symptoms after primary therapy for early prostate cancer: results of a prospective cohort study. J Clin Oncol 16 (1): 275-83, 1998.9440753 98101703
Smith DS, Carvalhal GF, Schneider K, et al.: Quality-of-life outcomes for men with prostate carcinoma detected by screening. Cancer 88 (6): 1454-63, 2000.10717630 20183530
Stanford JL, Feng Z, Hamilton AS, et al.: Urinary and sexual function after radical prostatectomy for clinically localized prostate cancer: the Prostate Cancer Outcomes Study. JAMA 283 (3): 354-60, 2000.10647798 20112324
Robinson JW, Moritz S, Fung T: Meta-analysis of rates of erectile function after treatment of localized prostate carcinoma. Int J Radiat Oncol Biol Phys 54 (4): 1063-8, 2002.12419432 22307220
Katz R, Salomon L, Hoznek A, et al.: Patient reported sexual function following laparoscopic radical prostatectomy. J Urol 168 (5): 2078-82, 2002.12394713 22281876
Noldus J, Michl U, Graefen M, et al.: Patient-reported sexual function after nerve-sparing radical retropubic prostatectomy. Eur Urol 42 (2): 118-24, 2002.12160581 22150788
Talcott JA, Rieker P, Propert KJ, et al.: Patient-reported impotence and incontinence after nerve-sparing radical prostatectomy. J Natl Cancer Inst 89 (15): 1117-23, 1997.9262249 97404163
Montorsi F, Briganti A, Salonia A, et al.: Current and future strategies for preventing and managing erectile dysfunction following radical prostatectomy. Eur Urol 45 (2): 123-33, 2004.14733995
Fosså SD, Woehre H, Kurth KH, et al.: Influence of urological morbidity on quality of life in patients with prostate cancer. Eur Urol 31 (Suppl 3): 3-8, 1997.9101208 97255877
Fowler FJ Jr, Barry MJ, Lu-Yao G, et al.: Outcomes of external-beam radiation therapy for prostate cancer: a study of Medicare beneficiaries in three surveillance, epidemiology, and end results areas. J Clin Oncol 14 (8): 2258-65, 1996.8708715 96326424
Shrader-Bogen CL, Kjellberg JL, McPherson CP, et al.: Quality of life and treatment outcomes: prostate carcinoma patients' perspectives after prostatectomy or radiation therapy. Cancer 79 (10): 1977-86, 1997.9149026 97292973
Litwin MS, Hays RD, Fink A, et al.: Quality-of-life outcomes in men treated for localized prostate cancer. JAMA 273 (2): 129-35, 1995.7799493 95097448
Helgason AR, Adolfsson J, Dickman P, et al.: Factors associated with waning sexual function among elderly men and prostate cancer patients. J Urol 158 (1): 155-9, 1997.9186344 97329885
Robinson JW, Dufour MS, Fung TS: Erectile functioning of men treated for prostate carcinoma. Cancer 79 (3): 538-44, 1997.9028365 97180189
Beard CJ, Propert KJ, Rieker PP, et al.: Complications after treatment with external-beam irradiation in early-stage prostate cancer patients: a prospective multiinstitutional outcomes study. J Clin Oncol 15 (1): 223-9, 1997.8996146 97149338
Mantz CA, Song P, Farhangi E, et al.: Potency probability following conformal megavoltage radiotherapy using conventional doses for localized prostate cancer. Int J Radiat Oncol Biol Phys 37 (3): 551-7, 1997.9112452 97266729
Roach M 3rd, Chinn DM, Holland J, et al.: A pilot survey of sexual function and quality of life following 3D conformal radiotherapy for clinically localized prostate cancer. Int J Radiat Oncol Biol Phys 35 (5): 869-74, 1996.8751394 96354678
Potosky AL, Davis WW, Hoffman RM, et al.: Five-year outcomes after prostatectomy or radiotherapy for prostate cancer: the prostate cancer outcomes study. J Natl Cancer Inst 96 (18): 1358-67, 2004.15367568
Montorsi F, Guazzoni G, Strambi LF, et al.: Recovery of spontaneous erectile function after nerve-sparing radical retropubic prostatectomy with and without early intracavernous injections of alprostadil: results of a prospective, randomized trial. J Urol 158 (4): 1408-10, 1997.9302132 97445844
Zelefsky MJ, Eid JF: Elucidating the etiology of erectile dysfunction after definitive therapy for prostatic cancer. Int J Radiat Oncol Biol Phys 40 (1): 129-33, 1998.9422568 98083031
Penson DF, Feng Z, Kuniyuki A, et al.: General quality of life 2 years following treatment for prostate cancer: what influences outcomes? Results from the prostate cancer outcomes study. J Clin Oncol 21 (6): 1147-54, 2003.12637483 22524139
Woolsey J, Miller N, Theodorescu D: Permanent interstitial brachytherapy for prostate cancer: a current review. World J Urol 21 (4): 209-19, 2003.12920559
Ravery V: Brachytherapy versus radical prostatectomy. BJU Int 87 (2): 141-3, 2001.11167631
Huyghe E, Delannes M, Wagner F, et al.: Ejaculatory function after permanent 125I prostate brachytherapy for localized prostate cancer. Int J Radiat Oncol Biol Phys 74 (1): 126-32, 2009.19362236
Stock RG, Kao J, Stone NN: Penile erectile function after permanent radioactive seed implantation for treatment of prostate cancer. J Urol 165 (2): 436-9, 2001.11176391
Ponholzer A, Oismüller R, Somay C, et al.: The effect on erectile function of 103palladium implantation for localized prostate cancer. BJU Int 95 (6): 847-50, 2005.15794796
Wright JL, Newhouse JH, Laguna JL, et al.: Localization of neurovascular bundles on pelvic CT and evaluation of radiation dose to structures putatively involved in erectile dysfunction after prostate brachytherapy. Int J Radiat Oncol Biol Phys 59 (2): 426-35, 2004.15145159
Schover LR, Fouladi RT, Warneke CL, et al.: Defining sexual outcomes after treatment for localized prostate carcinoma. Cancer 95 (8): 1773-85, 2002.12365027
Barnas JL, Pierpaoli S, Ladd P, et al.: The prevalence and nature of orgasmic dysfunction after radical prostatectomy. BJU Int 94 (4): 603-5, 2004.15329121
Barnas J, Parker M, Guhring P, et al.: The utility of tamsulosin in the management of orgasm-associated pain: a pilot analysis. Eur Urol 47 (3): 361-5; discussion 365, 2005.15716202
Choi JM, Nelson CJ, Stasi J, et al.: Orgasm associated incontinence (climacturia) following radical pelvic surgery: rates of occurrence and predictors. J Urol 177 (6): 2223-6, 2007.17509325
Lee J, Hersey K, Lee CT, et al.: Climacturia following radical prostatectomy: prevalence and risk factors. J Urol 176 (6 Pt 1): 2562-5; discussion 2565, 2006.17085160
Fraiman MC, Lepor H, McCullough AR: Changes in Penile Morphometrics in Men with Erectile Dysfunction after Nerve-Sparing Radical Retropubic Prostatectomy. Mol Urol 3 (2): 109-115, 1999.10851312
Munding MD, Wessells HB, Dalkin BL: Pilot study of changes in stretched penile length 3 months after radical retropubic prostatectomy. Urology 58 (4): 567-9, 2001.11597540
Savoie M, Kim SS, Soloway MS: A prospective study measuring penile length in men treated with radical prostatectomy for prostate cancer. J Urol 169 (4): 1462-4, 2003.12629384
Tuinman MA, Hoekstra HJ, Vidrine DJ, et al.: Sexual function, depressive symptoms and marital status in nonseminoma testicular cancer patients: a longitudinal study. Psychooncology 19 (3): 238-47, 2010.19319832
Joly F, Héron JF, Kalusinski L, et al.: Quality of life in long-term survivors of testicular cancer: a population-based case-control study. J Clin Oncol 20 (1): 73-80, 2002.11773156
Dahl AA, Bremnes R, Dahl O, et al.: Is the sexual function compromised in long-term testicular cancer survivors? Eur Urol 52 (5): 1438-47, 2007.17350159
Marshall FF, Mostwin JL, Radebaugh LC, et al.: Ileocolic neobladder post-cystectomy: continence and potency. J Urol 145 (3): 502-4, 1991.1997699 91148118
Kessler TM, Burkhard FC, Studer UE: Clinical indications and outcomes with nerve-sparing cystectomy in patients with bladder cancer. Urol Clin North Am 32 (2): 165-75, 2005.15862614
Enker WE: Potency, cure, and local control in the operative treatment of rectal cancer. Arch Surg 127 (12): 1396-401; discussion 1402, 1992.1365683 95134068
Schover LR, Fife M, Gershenson DM: Sexual dysfunction and treatment for early stage cervical cancer. Cancer 63 (1): 204-12, 1989.2910419 89089502
Bergmark K, Avall-Lundqvist E, Dickman PW, et al.: Vaginal changes and sexuality in women with a history of cervical cancer. N Engl J Med 340 (18): 1383-9, 1999.10228188 99228264
Jensen PT, Groenvold M, Klee MC, et al.: Early-stage cervical carcinoma, radical hysterectomy, and sexual function. A longitudinal study. Cancer 100 (1): 97-106, 2004.14692029
Schover LR, von Eschenbach AC: Sexual function and female radical cystectomy: a case series. J Urol 134 (3): 465-8, 1985.4032540 85293260
Andersen BL, Turnquist D, LaPolla J, et al.: Sexual functioning after treatment of in situ vulvar cancer: preliminary report. Obstet Gynecol 71 (1): 15-9, 1988.3336539 88095664
Weijmar Schultz WC, van de Wiel HB, Bouma J, et al.: Psychosexual functioning after the treatment of cancer of the vulva. A longitudinal study. Cancer 66 (2): 402-7, 1990.2369721 90315596
Mirhashemi R, Averette HE, Lambrou N, et al.: Vaginal reconstruction at the time of pelvic exenteration: a surgical and psychosexual analysis of techniques. Gynecol Oncol 87 (1): 39-45, 2002.12468340 22355907
Fobair P, Stewart SL, Chang S, et al.: Body image and sexual problems in young women with breast cancer. Psychooncology 15 (7): 579-94, 2006.16287197
Broeckel JA, Thors CL, Jacobsen PB, et al.: Sexual functioning in long-term breast cancer survivors treated with adjuvant chemotherapy. Breast Cancer Res Treat 75 (3): 241-8, 2002.12353813 22240805
Morales L, Neven P, Timmerman D, et al.: Acute effects of tamoxifen and third-generation aromatase inhibitors on menopausal symptoms of breast cancer patients. Anticancer Drugs 15 (8): 753-60, 2004.15494636
Burwell SR, Case LD, Kaelin C, et al.: Sexual problems in younger women after breast cancer surgery. J Clin Oncol 24 (18): 2815-21, 2006.16782919
Ganz PA, Greendale GA, Petersen L, et al.: Breast cancer in younger women: reproductive and late health effects of treatment. J Clin Oncol 21 (22): 4184-93, 2003.14615446
Ganz PA, Kwan L, Stanton AL, et al.: Quality of life at the end of primary treatment of breast cancer: first results from the moving beyond cancer randomized trial. J Natl Cancer Inst 96 (5): 376-87, 2004.14996859
Ganz PA, Rowland JH, Desmond K, et al.: Life after breast cancer: understanding women's health-related quality of life and sexual functioning. J Clin Oncol 16 (2): 501-14, 1998.9469334 98129236
Schubert MA, Sullivan KM, Schubert MM, et al.: Gynecological abnormalities following allogeneic bone marrow transplantation. Bone Marrow Transplant 5 (6): 425-30, 1990.2369683 90315513
Baruch J, Benjamin S, Treleaven J, et al.: Male sexual function following bone marrow transplantation. Bone Marrow Transplant 7 (Suppl 2): 52, 1991.1878717 91347007
Wingard JR, Curbow B, Baker F, et al.: Sexual satisfaction in survivors of bone marrow transplantation. Bone Marrow Transplant 9 (3): 185-90, 1992.1511256 92379514
Gradishar WJ, Schilsky RL: Effects of cancer treatment on the reproductive system. Crit Rev Oncol Hematol 8 (2): 153-71, 1988.3046766 88327972
Nijman JM, Schraffordt Koops H, Oldhoff J, et al.: Sexual function after surgery and combination chemotherapy in men with disseminated nonseminomatous testicular cancer. J Surg Oncol 38 (3): 182-6, 1988.3393001 88275472
Green DM, Whitton JA, Stovall M, et al.: Pregnancy outcome of female survivors of childhood cancer: a report from the Childhood Cancer Survivor Study. Am J Obstet Gynecol 187 (4): 1070-80, 2002.12389007 22275621
Frumovitz M, Sun CC, Schover LR, et al.: Quality of life and sexual functioning in cervical cancer survivors. J Clin Oncol 23 (30): 7428-36, 2005.16234510
Jensen PT, Groenvold M, Klee MC, et al.: Longitudinal study of sexual function and vaginal changes after radiotherapy for cervical cancer. Int J Radiat Oncol Biol Phys 56 (4): 937-49, 2003.12829128
Lamb MA: Sexuality and Sexual Functioning. In: McCorkle R, Grant M, Frank-Stromborg M, et al., eds.: Cancer Nursing: A Comprehensive Textbook. 2nd ed. Philadelphia, Pa: WB Saunders Co, 1996, pp 1105-1127.
Marijnen CA, van de Velde CJ, Putter H, et al.: Impact of short-term preoperative radiotherapy on health-related quality of life and sexual functioning in primary rectal cancer: report of a multicenter randomized trial. J Clin Oncol 23 (9): 1847-58, 2005.15774778
Heriot AG, Tekkis PP, Fazio VW, et al.: Adjuvant radiotherapy is associated with increased sexual dysfunction in male patients undergoing resection for rectal cancer: a predictive model. Ann Surg 242 (4): 502-10; discussion 510-1, 2005.16192810
Merrick GS, Butler WM, Galbreath RW, et al.: Erectile function after permanent prostate brachytherapy. Int J Radiat Oncol Biol Phys 52 (4): 893-902, 2002.11958881 21956643
Schover LR: Sexual rehabilitation after treatment for prostate cancer. Cancer 71 (3 Suppl): 1024-30, 1993.8428325 93153719
Potosky AL, Reeve BB, Clegg LX, et al.: Quality of life following localized prostate cancer treated initially with androgen deprivation therapy or no therapy. J Natl Cancer Inst 94 (6): 430-7, 2002.11904315 21901672
Basaria S, Lieb J 2nd, Tang AM, et al.: Long-term effects of androgen deprivation therapy in prostate cancer patients. Clin Endocrinol (Oxf) 56 (6): 779-86, 2002.12072048 22067186
Green HJ, Pakenham KI, Headley BC, et al.: Coping and health-related quality of life in men with prostate cancer randomly assigned to hormonal medication or close monitoring. Psychooncology 11 (5): 401-14, 2002 Sep-Oct.12228873 22215961
Klein EA: Hormone therapy for prostate cancer: a topical perspective. Urology 47 (1A Suppl): 3-12; discussion 29-32, 1996.8560675 96149761
Trachtenberg J: Innovative approaches to the hormonal treatment of advanced prostate cancer. Eur Urol 32 (Suppl 3): 78-80, 1997.9267790 97413147
Brufsky A, Fontaine-Rothe P, Berlane K, et al.: Finasteride and flutamide as potency-sparing androgen-ablative therapy for advanced adenocarcinoma of the prostate. Urology 49 (6): 913-20, 1997.9187700 97331368
Lahti E, Vuopala S, Kauppila A, et al.: Maturation of vaginal and endometrial epithelium in postmenopausal breast cancer patients receiving long-term tamoxifen. Gynecol Oncol 55 (3 Pt 1): 410-4, 1994.7835781 95137471
Kaplan HS: A neglected issue: the sexual side effects of current treatments for breast cancer. J Sex Marital Ther 18 (1): 3-19, 1992 Spring.1556755 92211736
Mourits MJ, Böckermann I, de Vries EG, et al.: Tamoxifen effects on subjective and psychosexual well-being, in a randomised breast cancer study comparing high-dose and standard-dose chemotherapy. Br J Cancer 86 (10): 1546-50, 2002.12085202 22079069
Ganz PA: Impact of tamoxifen adjuvant therapy on symptoms, functioning, and quality of life. J Natl Cancer Inst Monogr (30): 130-4, 2001.11773306 21635342
Meyerowitz BE, Desmond KA, Rowland JH, et al.: Sexuality following breast cancer. J Sex Marital Ther 25 (3): 237-50, 1999 Jul-Sep.10407796 99336134
Mortimer JE, Boucher L, Baty J, et al.: Effect of tamoxifen on sexual functioning in patients with breast cancer. J Clin Oncol 17 (5): 1488-92, 1999.10334535 99265704
Southern SA, Herrington CS: Molecular events in uterine cervical cancer. Sex Transm Infect 74 (2): 101-9, 1998.9634321 98287355
Massie MJ, Popkin MK: Depressive disorders. In: Holland JC, Breitbart W, Jacobsen PB, et al., eds.: Psycho-oncology. New York, NY: Oxford University Press, 1998, pp 518-540.
Demark-Wahnefried W, Rimer BK, Winer EP: Weight gain in women diagnosed with breast cancer. J Am Diet Assoc 97 (5): 519-26, 529; quiz 527-8, 1997.9145091 97290434
Phillips R: Coping With an Ostomy: A Guide to Living With an Ostomy For You and Your Family. Wayne, NJ: Avery Publishing Group, 1986.
Carpenter KM, Andersen BL, Fowler JM, et al.: Sexual self schema as a moderator of sexual and psychological outcomes for gynecologic cancer survivors. Arch Sex Behav 38 (5): 828-41, 2009.18418707
Andersen BL, Woods XA, Copeland LJ: Sexual self-schema and sexual morbidity among gynecologic cancer survivors. J Consult Clin Psychol 65 (2): 221-9, 1997.9086685 97241392
Zebrack BJ, Foley S, Wittmann D, et al.: Sexual functioning in young adult survivors of childhood cancer. Psychooncology 19 (8): 814-22, 2010.19862693

## Assessment of Sexual Function in People With Cancer

No clear guidelines address sexuality during the stages of disease and its treatment. When therapeutic decisions are being made, providers may offer education and information to patients, ideally with the partner present, regarding known risks of sexual morbidity associated with cancer treatments. Oncology professionals assist patients and their partners by asking specific open-ended questions to validate the importance of sexual health concerns, thus providing an environment in which the patient and couple are encouraged and feel safe to express personal concerns. Assessment should be sensitive to the subtle ways in which changes in sexual function affect men’s self-image and masculine identity.[1]

Providers may want examine their own thoughts and feelings regarding sexuality. When providers are not comfortable addressing issues of sexuality, referrals may be offered to alternate resources. Although some patients may not want to discuss their sexual health, providers may offer the option, conveying that sex is an appropriate topic to cover during future visits.

Because sexual function is one important aspect of quality of life, the follow-up oncology visit is a key opportunity for health care providers to assess whether a cancer patient is experiencing sexual problems. Although it would be ideal if an oncologist carried out the sexual assessment, time constraints and lack of training or comfort in discussing sexual issues often interfere with this goal. Furthermore, many people who have finished their cancer treatment have their routine follow-up care with a primary practitioner rather than an oncology specialist.

At least in oncology settings, it may be helpful to designate and train a member of the team, such as an oncology nurse or social worker, as the expert on sexuality issues. That provider can take responsibility for asking about a variety of quality-of-life issues, including relationships and sexuality. A minimal sexual assessment might consist of asking the following question: “Many cancer survivors notice changes or problems in their sex lives after cancer treatment. Do you have any problems or concerns related to sexuality?” Simple problems can be handled with immediate reassurance or advice, but the oncology team may also build a network of specialists willing to help cancer patients. This network of healthcare professionals includes:

- Mental health professionals trained in sex therapy and other sexual issues.
- Gynecologists familiar with women’s concerns about hormone replacement or dyspareunia.
- Urologists who specialize in treating male sexual dysfunction.
- Infertility specialists who can treat younger patients who are interested in having children.

The literature contains a number of articles and resources that address sexual assessment,[2] with many specific to cancer patients.[2-5] The Kaplan model provides a useful interview guide to evaluate sexual problems in healthy and medically ill individuals, focusing on the chief complaint, sexual status, psychiatric status, family and psychosocial history, relationship assessment, summary, and recommendations.[6] Kaplan’s model has been applied to oncology settings, with brief descriptions of the assessment for each part of the interview.[3,7] The PLISSIT (permission, limited information, specific suggestions, and intensive therapy) model [8] is another model of assessment and intervention commonly used as a framework for sexual rehabilitation in cancer care and medical illness.[5,9-12]

### General Factors Affecting Sexual Functioning Evaluated in Assessment

Once a possible sexual problem has been identified, the most important assessment tool for the oncology health provider is a clinical interview with an individual man or woman, or with a couple.[13] The following section describes factors known to impact current sexual functioning .

#### Current sexual status

In the evaluation of an individual’s sexual function, the initial phase of assessment serves to clarify the nature of the individual’s problem and/or complaint. Aspects of current sexual function include the frequency of experiencing spontaneous desire for sex; ease of feeling subjective pleasure with sexual stimulation; energy for sexual activity; and signs of physiological arousal, including the ability to achieve and maintain a firm erection for a man, and vaginal expansion and lubrication for a woman. The ability to reach an orgasm is another important measure of sexual function. It is helpful to ask what types of sexual stimulation can trigger an orgasm (i.e., self-touch, use of a vibrator or shower massage, partner caressing, oral stimulation, or intercourse). Pain in the genital area that occurs with sexual activity should be described in detail:

- Where is the pain?
- What does it feel like?
- What kinds of sexual activity trigger it?
- Does it happen every time?
- How long does it last?

When these lines of inquiry elicit a sexual problem, the interviewer may ask when the problem began, especially whether a cancer diagnosis or particular treatment occurred close in time to onset of the problem. Because many people who have cancer take prescription medications that can interfere with sexual function, including antihypertensives, antidepressants, or psychotropic medications, the interviewer may ask whether a new medication or change of dosage was prescribed at the problem’s onset.

#### Premorbid sexual functioning

An individual’s past (pre-illness) sexual development, preferences, and experience are vital to assessment of sexual status. The level of sexual functioning before diagnosis and treatment, interest, satisfaction, and importance of sexual functioning in the relationship all influence the patient’s potential distress related to current sexual status. Individuals who have already experienced sexual difficulties may be especially vulnerable to the effects of treatment.[14] Clinicians are careful not to make assumptions regarding the patient’s previous sexual experience or the importance of sexual expression.

### Psychosocial Aspects of Sexuality

#### Relationship status

The patient may or may not have an available partner at the time of diagnosis. Sexuality is taken no less seriously by the clinician or the patient if there is no partner. For patients with a partner, the clinician may consider and discuss the duration, quality, and stability of the relationship before diagnosis. Additionally, as many patients fear rejection and abandonment, the clinician may inquire about the partner’s response to the illness and the patient’s concerns about the impact of treatment on the partner.[15-17] Partners share many of the same reactions as patients in that their most significant concerns typically relate to loss and fear of death. Moreover, the partner’s physical, sexual, and emotional health are considered relative to his/her previous and current sexual status in a complete assessment. A clinician recognizes that most couples experience difficulty discussing sexual preferences, concerns, and fears even under ideal circumstances and that sexual communication problems tend to worsen with illness and threat of death.

#### Psychological status

The affective spectrum during cancer treatment ranges from disbelief to clinical depression and typically changes over time. Anxiety and depression are the two most common affective disruptions among patients with cancer and both have been found to have deleterious effects on sexual functioning.[3-5,7,18] A clinician will determine the following:

- Current mental status and any history of depression or other psychiatric disorder.
- Previous psychotherapy.
- Treatment with psychotropic medication, and/or hospitalizations.

Current use of psychotropic medications should also be reviewed with respect to impact on sexual function. Cancer treatment can produce changes to the body that negatively impact body image and self-esteem.[4,5,19] Commonly, patients have difficulty seeing themselves as sexually attractive during and after treatment. Identifying body-image disturbances is important to incorporate into goals of care and rehabilitation. Frequently, the couple experiences changes of social roles during treatment. An individual’s identity and sense of worth may be threatened when role changes occur.[4,15] The partner’s participation in the patient’s physical care often negatively impacts feelings of sexuality. Younger couples, more than older couples, may be vulnerable to problems with playing alternative or new domestic roles and experiencing the myriad life and financial stressors associated with treatment.[4]

To better illustrate the relationship between sexual health and psychological health, numerous sexual, physical, and psychological measures were examined in a cross-sectional study of 186 partnered women who had gynecologic cancers.[20] Diagnoses included endometrial, ovarian/peritoneal, cervical, and vulvar cancers. Most women had stage I to stage III cancers and were white, college educated, and married. Their mean age was 55 years. Sexual morbidity was defined as a summed score of the following five factors:

- Appearance/desire (seven items).
- Satisfaction/activity (six items).
- Arousal (seven items).
- Lubrication (four items).
- Pain (four items).

Sexual morbidity was moderately and significantly correlated with depression (r = 0.34) and traumatic stress (r = 0.30). It was also low-moderately correlated with body image (r = 0.25); and with both components of the Medical Outcomes Study—Short Form 12: physical health (activity interference/general health, r = 0.34) and mental health (calm/downhearted, energy, emotional problems, r = 0.25). Sexual morbidity was moderately to strongly and significantly correlated with fatigue (r = 0.44). Sexual morbidity also contributed uniquely and significantly to depression, accounting for 48% of the variance; body change stress, 26% of the variance; and psychological quality of life, 31% of the variance. The authors concluded that addressing sexual morbidity may improve psychological health.[20]

### Medical Aspects of Sexuality

Past medical history with a particular emphasis on other concurrent medical illness for which the patient is receiving treatment will be assessed. Comorbidity contributes to risk of sexual dysfunction and additional decrease in social and role functioning, mental health, and health perceptions. Medical illnesses that impact the endocrine, vascular, and nervous systems are all known to have a potential deleterious effect on the sexual response cycle.[13,21,22]

Diabetes, hypertension, vascular disease, multiple sclerosis, and many other disorders impact sexual function, particularly the quality of erections in men. Two textbooks extensively review the impact of chronic illness and disability on sexual function.[13,22] In addition, with the growing body of evidence demonstrating the severity and chronicity of fatigue in cancer survivors, the co-existence of cancer-related fatigue may be a major barrier. In a descriptive cross-sectional study, fatigue was significantly and moderately correlated with all sexual functioning and satisfaction measures in 175 women with gynecologic cancer.[23] Therefore, assessing and addressing cancer-related fatigue, even in long-term survivors, is important.

Lifestyle factors, including smoking and substantial alcohol consumption, are also risk factors for sexual morbidity. In men, cigarette smoking may induce vasoconstriction and penile venous leakage.[21] In large amounts, alcohol is a strong sedative-hypnotic, producing decreased libido and transient erectile dysfunction.[21]

Pharmacologic treatment for cancer and chronic illness in general is often a necessary and integral component of health maintenance. Some pharmacologic treatments, however, may have direct or indirect deleterious effects on sexual function through multiple physiologic and psychologic pathways. Pharmacologic agents that may negatively affect sexual response are addressed in the section on pharmacologic effects. (Refer to the section on Pharmacological Effects of Supportive Care Medications on Sexual Function in this summary for more information.) A number of resources provide further delineation of the mechanisms for changes in sexual function associated with these agents and include listings of specific medications and known effects on sexual function.[4,24-26]

#### Questionnaires and self-report scales

Brief questionnaires that measure sexual dysfunction may be helpful, particularly when screening larger groups of cancer patients for sexual dysfunction or when conducting research on sexuality as an aspect of quality of life.

Men: The International Index of Erectile Function (IIEF, 15 items) and the Brief Male Sexual Function Inventory (BMSFI, 11 items) are well-validated scales measuring aspects of sexual function and satisfaction in men.[27,28] Sexual problems can also be identified with a briefer five-item scale, the Sexual Health Inventory for Men (SHIM), which is a validated self-report scale that can be used to identify erectile dysfunction in a variety of clinical settings.[28]

Women: For women, there are several brief measures with established psychometric properties that assess sexual functioning and satisfaction: the Brief Index of Sexual Functioning for Women (BISF-W, 22 items), the Sex History Form (SHF, 46 items), the Changes in Sexual Functioning Questionnaire (CSFQ, 35 items), the Derogatis Interview for Sexual Functioning (DISF/DISF-SR, 25 items), the Female Sexual Function Index (FSFI, 19 items), and the Golombok-Rusk Inventory of Sexual Satisfaction (GRISS, 28 items).[13,29,30]

These scales vary in their reliability, validity, method of attainment (i.e., patient vs. clinician rates; structured vs. semistructured), type and number of symptoms assessed, and time frame of assessment. To accurately reflect changes over time, one must obtain systematic assessment of premorbid, baseline, and follow-up levels of sexual function and satisfaction.

#### Medical tests

In addition to paper-and-pencil self-report measures of sexuality, some medical evaluations of the adequacy of the physiological response are available.[31]

Men: For men, some of the more useful evaluations include the following:

- The Rigiscan, a computerized electronic instrument that measures the adequacy of nocturnal erections.
- Penile ultrasound studies to document hemodynamics of erection.
- Hormonal assays.

Women: In women, the most common medical evaluations include the following:

- The use of the vaginal maturation index to measure estrogenization.
- A pelvic examination to identify sources of pain that occur during sexual activity.
- Hormonal assays.

More sophisticated measures of vaginal blood flow or sensory thresholds have been studied but have not gained wide acceptance.

Review of the literature highlights the need for prospective studies with longer-term follow-up, validated measures, and larger sample sizes. In particular, issues of sexual recovery in women have received too little clinical attention and research.

### References

Bokhour BG, Clark JA, Inui TS, et al.: Sexuality after treatment for early prostate cancer: exploring the meanings of "erectile dysfunction". J Gen Intern Med 16 (10): 649-55, 2001.11679031 21536963
Lamb MA, Woods NF: Sexuality and the cancer patient. Cancer Nurs 4 (2): 137-44, 1981.6907054 81135472
Roth AJ, Carter J, Nelson CJ: Sexuality after cancer. In: Holland JC, Breitbart WS, Jacobsen PB, et al., eds.: Psycho-oncology. 2nd ed. New York, NY: Oxford University Press, Inc., 2010, pp 245-50.
Schover LR: Sexuality and Fertility After Cancer. New York, NY: John Wiley and Sons, 1997.
Lamb MA: Sexuality and Sexual Functioning. In: McCorkle R, Grant M, Frank-Stromborg M, et al., eds.: Cancer Nursing: A Comprehensive Textbook. 2nd ed. Philadelphia, Pa: WB Saunders Co, 1996, pp 1105-1127.
Kaplan HS: The Evaluation of Sexual Disorders: Psychological and Medical Aspects. New York, NY: Brunner/Mazel Inc, 1983.
Auchincloss S: Sexual dysfunction after cancer treatment. Journal of Psychosocial Oncology 9 (1): 23-42, 1991.
Annon JS: The Behavioral Treatment of Sexual Problems. Vol 1. Honolulu, Hawaii: Enabling Systems, Inc, 1975.
Penson RT, Gallagher J, Gioiella ME, et al.: Sexuality and cancer: conversation comfort zone. Oncologist 5 (4): 336-44, 2000.10965002 20423325
Gallo-Silver L: The sexual rehabilitation of persons with cancer. Cancer Pract 8 (1): 10-5, 2000 Jan-Feb.10732534 20197085
Sipski ML, Alexander CJ: Impact of disability or chronic illness on sexual function. In: Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997, pp 3-9.
Waldman TL, Eliasof B: Cancer. In: Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997, pp 337-354.
Schover LR, Jensen SB: Sexuality and Chronic Illness: A Comprehensive Approach. New York, NY: The Guilford Press, 1988.
Talcott JA, Manola J, Clark JA, et al.: Time course and predictors of symptoms after primary prostate cancer therapy. J Clin Oncol 21 (21): 3979-86, 2003.14581420
McNeff EA: Issues for the partner of the person with a disability. In: Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997, pp 595-616.
Stead ML: Sexual function after treatment for gynecological malignancy. Curr Opin Oncol 16 (5): 492-5, 2004.15314521
Wimberly SR, Carver CS, Laurenceau JP, et al.: Perceived partner reactions to diagnosis and treatment of breast cancer: impact on psychosocial and psychosexual adjustment. J Consult Clin Psychol 73 (2): 300-11, 2005.15796638
Wise TN: Sexual functioning in neoplastic disease. Med Aspects Hum Sex 12: 16-31, 1978.
Whipple B, McGreer KB: Management of female sexual dysfunction. In: Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997, pp 511-536.
Levin AO, Carpenter KM, Fowler JM, et al.: Sexual morbidity associated with poorer psychological adjustment among gynecological cancer survivors. Int J Gynecol Cancer 20 (3): 461-70, 2010.20375814
Lue TF: Contemporary Diagnosis and Management of Male Erectile Dysfunction. Newton, Pa: Handbooks in Health Care, 1999.
Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997.
Carpenter KM, Andersen BL, Fowler JM, et al.: Sexual self schema as a moderator of sexual and psychological outcomes for gynecologic cancer survivors. Arch Sex Behav 38 (5): 828-41, 2009.18418707
Crenshaw TL, Goldberg JP: Sexual Pharmacology: Drugs That Affect Sexual Functioning. New York, NY: WW Norton & Company, 1996.
Weiner DN, Rosen RC: Medications and their impact. In: Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997, pp 85-118.
Drugs that cause sexual dysfunction: an update. Med Lett Drugs Ther 34 (876): 73-8, 1992.1353245 92342080
Rosen RC, Riley A, Wagner G, et al.: The international index of erectile function (IIEF): a multidimensional scale for assessment of erectile dysfunction. Urology 49 (6): 822-30, 1997.9187685 97331353
Rosen RC: Evaluation of the patient with erectile dysfunction: history, questionnaires, and physical examination. Endocrine 23 (2-3): 107-11, 2004 Mar-Apr.15146087
Althof SE, Rosen RC, DeRogatis L, et al.: Outcome measurement in female sexual dysfunction clinical trials: review and recommendations. J Sex Marital Ther 31 (2): 153-66, 2005 Mar-Apr.15859374
Meston CM, Derogatis LR: Validated instruments for assessing female sexual function. J Sex Marital Ther 28 (Suppl 1): 155-64, 2002.11898697
Schover LR, Montague DK, Lakin MM: Sexual problems. In: DeVita VT Jr, Hellman S, Rosenberg SA, eds.: Cancer: Principles and Practice of Oncology. 5th ed. Philadelphia, Pa: Lippincott-Raven Publishers, 1997, pp 2857-2872.

## Pharmacological Effects of Supportive Care Medications on Sexual Function

The following sections describe the effects of various commonly used medications on sexual function in people with cancer. People undergoing cancer treatment are often treated with multiple medications that can cause diminished desire or other difficulties in sexual functioning, which can add to the impact of surgery, radiation, and chemotherapy on sexuality. Medications may adversely affect one or more of the physiologic (i.e., vascular, hormonal, neurologic) mechanisms that underlie normal sexual function. Drug therapy may also affect sexual functioning indirectly through concomitant effects on mental alertness, mood state, and/or social interactions. The evaluation of sexual problems in people with cancer must, therefore, be comprehensive and attuned to the multiple etiologies of these difficulties. The following sections may be helpful in identifying some of the possible medication side effects, though more than one may play a role in an individual.

### Effect of Opioids on Sexual Function

Reduced libido is a well-known phenomenon for those using heroin or participating in a methadone maintenance program. Unfortunately, this effect is poorly understood by clinicians prescribing opioids for pain. Animal studies confirm that opioids lower testosterone levels and suppress sexual function in males.[1] Early case studies of persons using heroin or methadone described diminished libido, sexual dysfunction, reduced testosterone levels in men, and amenorrhea in women.[2-7][Level of evidence: II]

Two mechanisms are thought to be responsible for the reported reduction in libido associated with opioid use.

- Opioids inhibit the production of gonadotropin-releasing hormone, subsequently decreasing the release of luteinizing hormone (LH), thus decreasing the production of testosterone. Opioids also produce hyperprolactinemia, which causes negative feedback on the release of LH and decreases the production of testosterone.[8][Level of evidence: IV]
- Opioids are known to alter the normal function of the hypothalamic-pituitary-gonadal axis.[9][Level of evidence: II]

These effects resolve after the opioid has been discontinued.

Other case reports of patients receiving opioids for relief of chronic pain suggest these same findings.[10,11][Level of evidence: III][12][Level of evidence: II] Another case-control study examined the effects of chronic oral opioid administration in survivors of cancer and, consistent with the research on intrathecal administration, found marked central hypogonadism among the opioid users with significant symptoms of sexual dysfunction, depression, and fatigue.[12] Although the limited research that has examined the relationships among sexual functioning, chronic pain, opioid therapy, and testosterone levels has been predominantly evaluated in men, anecdotal clinical experience supports similar relationships in women. Empirical support has been documented for women in a study that examined the endocrine consequences of long-term intrathecal administration of opioids. Reduced libido was reported in 95% of the men and 68% of the women, with significant reduction in serum LH for both groups and in serum testosterone for the men. All of the premenopausal women (n = 21) developed either amenorrhea or an irregular menstrual cycle, with ovulation in only one woman.[13][Level of evidence: II]

The long-term effects of reduced testosterone and amenorrhea are not well known. Sexuality is an important component of one’s quality of life, especially for cancer survivors, but also for some people with advanced disease. Patients may report a history of changes in libido and sexual dysfunction. If these changes are distressing to the patient, serum total- and free-testosterone levels and prolactin levels may be obtained.[14] Should the patient seek improvement in libido and performance, treatment is often empirical, keeping in mind that there are many potential causes of changes in sexual function. Treatment options may include the following:[15]

- Using nonopioids for pain.
- Adding adjuvant analgesics in the hope that the opioid dose may be reduced.
- Replacing testosterone through injections, a patch, or gel, if not contraindicated.

More research is needed to understand the relationship between opioids and sexual function, as well as the most effective treatment strategies.

### Selective Serotonin Reuptake Inhibitors

Decreased sexual desire is a frequent symptom of depression, and sexual impairment in depressed patients has been consistently confirmed in controlled studies.[16,17][Level of evidence: II] Continued recognition of the difficulty in discerning the subjective complaints that are a part of the depressive syndrome, the consequences of treatment, a pre-existing sexual dysfunction, or a combination of these factors is needed. Approximately one-third of depressed patients without medication treatment report reduced sexual desire, anorgasmia, delayed ejaculation, or erectile dysfunction.[18] Selective serotonin reuptake inhibitors (SSRIs), tricyclics, monoamine oxidase inhibitors, and lithium have all been associated with sexual dysfunction.[19,20]

Sexual desire is mediated through the central nervous system by the reception of sensory stimuli and the subsequent interpretation through the limbic system and prefrontal cortex.[21] Physiologically, serotonin is stored in synaptosomal vesicles awaiting another impulse for release. SSRIs inhibit this uptake mechanism, which results in the pooling of serotonin in the synaptic space.[21,22] The excess serotonin causes the postsynaptic receptors to down-regulate, resulting in decreased stimulation of the lower erectile centers. It is this action that is thought to be the principal mechanism for SSRI-induced sexual dysfunction. Additionally, the hypothalamic and preoptic nuclei contribute to the mediation of this process. Serotonin inhibits hypothalamic arousal postsynaptic receptors resulting in the release of excitatory neurotransmitters. These neurotransmitters are responsible for the activation of the erectile centers of the spinal column. Upon activation of the erectile centers, subsequent erection, orgasm, and detumescence occur in males, whereas genital vasocongestion, vaginal lubrication, and clitoral enlargement occur in females.[23]

There are no well-controlled studies that evaluate the effects of SSRIs on sexual function within the oncology patient population. There are several studies, however, that have examined the effects of fluoxetine (Prozac), fluvoxamine (Luvox), paroxetine (Paxil), and sertraline (Zoloft) on sexual function in patients being treated for depression or obsessive-compulsive disorder. There are few data regarding the prevalence of sexual dysfunction with the use of citalopram (Celexa) in the treatment of depression. Sexual dysfunction from SSRIs has generally been reported to affect approximately 1% to 15% of patients in clinical trials of these medications in physically healthy depressed patients. Other studies, however, report significantly higher rates of sexual dysfunction that may more accurately reflect the incidence typical of clinical practice. A large-scale retrospective nonrandomized comparison trial of 596 psychiatric outpatients (167 men, 429 women) treated for at least 6 months with sertraline (n = 170), fluoxetine (n = 298), venlafaxine (n = 36), or paroxetine (n = 265) found that symptoms of sexual dysfunction were spontaneously reported by approximately 20% of patients overall and were more common in men (23.4%) and married individuals of both genders. The rates of sexual dysfunction associated with each of the SSRIs were the following:

- Sertraline (16%).
- Fluoxetine (20%).
- Paroxetine (22%).
- Venlafaxine (38%).

For this sample, the most common sexual symptoms reported were orgasmic delay or anorgasmia, followed by decreased desire and arousal difficulties.[24][Level of evidence: III]

A prospective multicenter study of 344 patients (152 men, 192 women) with mixed psychiatric disorders treated with SSRIs and systematic inquiry of sexual dysfunction by the physician found the frequency of sexual side effects was highest for paroxetine (65%), followed by fluvoxamine (59%), sertraline (56%), and fluoxetine (54%).[25][Level of evidence: II] Paroxetine produced significantly greater delay of orgasm or ejaculation (48%) and more frequent erectile dysfunction and vaginal lubrication difficulties than sertraline (37% and 16%), fluvoxamine (31% and 10%), or fluoxetine (34% and 16%). Loss of libido and anorgasmia were more severe in women, though men reported a greater frequency of sexual dysfunction. The effects of SSRIs are dose related and may vary among the group. The incidence of sexual dysfunction obtained by patient self-report does not appear to reflect the true incidence of sexual dysfunction associated with antidepressant therapy, and systematic inquiry by providers is needed as sexual dysfunction may be an unrecognized cause of noncompliance.[26] Two critical reviews of the effects of SSRIs on sexual function are available.[26,27][Level of evidence: IV]

For individuals with premature ejaculation, SSRIs provide an effective treatment. In a double-blind placebo-controlled trial of men with lifelong rapid ejaculation, paroxetine delayed ejaculation the most, and fluvoxamine delayed ejaculation the least. Daily doses of 20 mg of paroxetine and 20 mg of fluoxetine may be regarded as effective treatments for lifelong rapid ejaculation.[28][Level of evidence: I] Cancer patients treated with these medications in clinical situations may have higher rates of anorgasmia, decreased sexual desire, and other problems, possibly because these medications compound the difficulties cancer patients encounter from multiple etiologies. There are several possible interventions in the management of SSRI-induced sexual dysfunction. An obvious, though not always appropriate, possibility is to decrease the dosage of the SSRI. Altering the timing of SSRI administration, either by delaying doses until after intercourse or dosing immediately before intercourse,[29][Level of evidence: IV] may be an effective intervention.

There are published data to suggest a drug-holiday intervention over the weekend can improve the sexual dysfunction induced by SSRIs.[30][Level of evidence: II] Another possibility is the addition of another medication to help in the control of SSRI-induced sexual dysfunction or consideration of another antidepressant with less known sexual side effects. In a randomized, double-blind, multicenter trial comparison of sustained-release bupropion (bupropion SR) and sertraline, both were found to be similarly efficacious in the treatment of outpatients with moderate-to-severe depression. There was a significantly greater percentage of sertraline-induced sexual dysfunction (63% and 41% of men and women, respectively), compared with bupropion SR–induced sexual dysfunction (15% and 7%, respectively).[31][Level of evidence: I]

A definitive treatment has not been established for SSRI-induced sexual dysfunction in males or females. The oncology patient population presents with significantly more obstacles in the management of sexual dysfunction, as compared with patients whose symptoms are being managed with SSRIs for depression alone. The etiology of sexual dysfunction in cancer patients is multifactorial and complex. The above data are intended to provide practitioners and patients with possible options in the management of SSRI-induced sexual dysfunction.

### References

Gomez-Marrero J, Feria M, Mas M: Stimulation of opioid receptors suppresses penile erectile reflexes and seminal emission in rats. Pharmacol Biochem Behav 31 (2): 393-6, 1988.2854263 89221084
De Leon G, Wexler HK: Heroin addiction: its relation to sexual behavior and sexual experience. J Abnorm Psychol 81 (1): 36-8, 1973.4690214 73133574
Pelosi MA, Sama JC, Caterini H, et al.: Galactorrhea-amenorrhea syndrome associated with heroin addiction. Am J Obstet Gynecol 118 (7): 966-70, 1974.4856399 74129629
Cicero TJ, Bell RD, Wiest WG, et al.: Function of the male sex organs in heroin and methadone users. N Engl J Med 292 (17): 882-7, 1975.1117911 75118797
Wang C, Chan V, Yeung RT: The effect of heroin addiction on pituitary-testicular function. Clin Endocrinol (Oxf) 9 (5): 455-61, 1978.569031 79064215
Chan V, Wang C, Yeung RT: Effects of heroin addiction on thyrotrophin, thyroid hormones and porlactin secretion in men. Clin Endocrinol (Oxf) 10 (6): 557-65, 1979.113145 80002255
Spagnolli W, Torboli P, Mattarei M, et al.: Calcitonin and prolactin serum levels in heroin addicts: study on a methadone treated group. Drug Alcohol Depend 20 (2): 143-8, 1987.3678052 88054574
Gulliford SM: Opioid-induced sexual dysfunction. Journal of Pharmaceutical Care in Pain and Symptom Control 6 (2): 67-74, 1998.
Mirin SM, Meyer RE, Mendelson JH, et al.: Opiate use and sexual function. Am J Psychiatry 137 (8): 909-15, 1980.6774622 81019317
Paice JA, Penn RD, Ryan WG: Altered sexual function and decreased testosterone in patients receiving intraspinal opioids. J Pain Symptom Manage 9 (2): 126-31, 1994.7517429 94292841
Paice JA, Penn RD: Amenorrhea associated with intraspinal morphine. J Pain Symptom Manage 10 (8): 582-3, 1995.8594117 96135501
Rajagopal A, Vassilopoulou-Sellin R, Palmer JL, et al.: Symptomatic hypogonadism in male survivors of cancer with chronic exposure to opioids. Cancer 100 (4): 851-8, 2004.14770444
Abs R, Verhelst J, Maeyaert J, et al.: Endocrine consequences of long-term intrathecal administration of opioids. J Clin Endocrinol Metab 85 (6): 2215-22, 2000.10852454 20309294
Govier FE, McClure RD, Kramer-Levien D: Endocrine screening for sexual dysfunction using free testosterone determinations. J Urol 156 (2 Pt 1): 405-8, 1996.8683690 96289352
Munarriz R, Maitland S, Garcia SP, et al.: A prospective duplex Doppler ultrasonographic study in women with sexual arousal disorder to objectively assess genital engorgement induced by EROS therapy. J Sex Marital Ther 29 (Suppl 1): 85-94, 2003.12735092
Nofzinger EA, Thase ME, Reynolds CF 3rd, et al.: Sexual function in depressed men. Assessment by self-report, behavioral, and nocturnal penile tumescence measures before and after treatment with cognitive behavior therapy. Arch Gen Psychiatry 50 (1): 24-30, 1993.8422218 93135631
Thase ME, Reynolds CF 3rd, Jennings JR, et al.: Nocturnal penile tumescence is diminished in depressed men. Biol Psychiatry 24 (1): 33-46, 1988.3370276 88222331
Mathew RJ, Weinman M, Claghorn JL: Tricyclic side effects without tricyclics in depression. Psychopharmacol Bull 16 (3): 58-60, 1980.7403406 80257239
Crenshaw TL, Goldberg JP: Sexual Pharmacology: Drugs That Affect Sexual Functioning. New York, NY: WW Norton & Company, 1996.
Fleming MP, Paice JA: Sexuality and chronic pain. J Sex Educ Ther 26 (3): 204-14, 2001.
Sanders-Bush E, Mayer SE: 5-Hydroxytryptamine (serotonin) receptor agonists and antagonists. In: Hardman JG, Limbird LE, Molinoff PB, et al., eds.: Goodman & Gilman's The Pharmacological Basis of Therapeutics. 9th ed. New York, NY: McGraw-Hill, 1996, pp 249-263.
Matsumoto AM: Endocrine and reproductive diseases. In: Bennett JC, Plum F, eds.: Cecil Textbook of Medicine. 20th ed. Philadelphia, Pa: WB Saunders, 1996, pp 1328-1329.
Frye CB, Berger JE: Treatment of sexual dysfunction induced by selective serotonin-reuptake inhibitors. Am J Health Syst Pharm 55 (11): 1167-9, 1998.9626383 98289685
Keller Ashton A, Hamer R, Rosen RC: Serotonin reuptake inhibitor-induced sexual dysfunction and its treatment: a large-scale retrospective study of 596 psychiatric outpatients. J Sex Marital Ther 23 (3): 165-75, 1997 Fall.9292832 97438343
Montejo-González AL, Llorca G, Izquierdo JA, et al.: SSRI-induced sexual dysfunction: fluoxetine, paroxetine, sertraline, and fluvoxamine in a prospective, multicenter, and descriptive clinical study of 344 patients. J Sex Marital Ther 23 (3): 176-94, 1997 Fall.9292833 97438344
Lane RM: A critical review of selective serotonin reuptake inhibitor-related sexual dysfunction; incidence, possible aetiology and implications for management. J Psychopharmacol 11 (1): 72-82, 1997.9097897 97250578
Rosen RC, Lane RM, Menza M: Effects of SSRIs on sexual function: a critical review. J Clin Psychopharmacol 19 (1): 67-85, 1999.9934946 99131645
Segraves RT, Kavoussi R, Hughes AR, et al.: Evaluation of sexual functioning in depressed outpatients: a double-blind comparison of sustained-release bupropion and sertraline treatment. J Clin Psychopharmacol 20 (2): 122-8, 2000.10770448 20231217
Olivera AA: Sexual dysfunction due to clomipramine and sertraline: nonpharmacological resolution. J Sex Educ Ther 20 (2): 119-122, 1994.
Rothschild AJ: Selective serotonin reuptake inhibitor-induced sexual dysfunction: efficacy of a drug holiday. Am J Psychiatry 152 (10): 1514-6, 1995.7573593 96021163
Waldinger MD, Hengeveld MW, Zwinderman AH, et al.: Effect of SSRI antidepressants on ejaculation: a double-blind, randomized, placebo-controlled study with fluoxetine, fluvoxamine, paroxetine, and sertraline. J Clin Psychopharmacol 18 (4): 274-81, 1998.9690692 98353002

## Treatment of Sexual Problems in People With Cancer

Although research is beginning to clarify the frequency and types of sexual problems people with cancer experience, few treatment programs for sexual dysfunction in cancer patients have been designed or tested. Programs that integrate medical and psychological modalities aimed at the treatment of sexual dysfunction in those who have had cancer are warranted. Additionally, these programs must be cost-effective and accessible to people with cancer.

Many patients are fearful or anxious of their first sexual experience after treatment and can often begin a pattern of sexual avoidance. If the patient is concerned about sending mixed signals to his or her partner, this can lead to avoidance of general intimacy and touch. The partner may also contribute to the generalized avoidance of intimacy through his or her reluctance to initiate any behavior that may be perceived as pressure to be more intimate or may contribute to any potential physical discomfort from greater expression of physical intimacy. Providers need to reassure patients and their significant others that even when intercourse is difficult or impossible, their sex lives are not over. The couple can give and receive pleasure and satisfaction by expressing their love and intimacy with their hands, mouths, tongues, and lips. Providers may encourage the couple to express affection in alternative ways (e.g., hugging, kissing, nongenital touching) until they feel ready to resume sexual activity. The couple will be encouraged to communicate honest feelings, concerns, and preferences.

If a man cannot attain an erection firm enough for penetration, and/or if intercourse is painful for a woman, some couples may be willing to find alternative ways to bring each other to orgasm and express sexual intimacy. Sensate focus exercises of noncoital pleasuring,[1,2] based on principles of sensuous massage, give couples an experience of sexual expression that allows them to be physically close and intimate without pressure and anxiety that can be associated with anticipation of intercourse. The structure and ground rules of sensate focus can help bypass performance anxiety (self-consciousness and self-evaluation) and enable the couple to lose themselves in the current experience of pleasurable touch. These exercises also help the couple communicate about potentially problematic or emotionally sensitive areas of the body. Providers may determine a couple’s openness to modification of their sexual technique.

As many patients will experience anticipatory anxiety about re-establishing sexual intimacy with their partner and potential uncertainty of their own sexual response, the potential advantages of self-stimulation can be explored. Self-stimulation has the advantage of allowing the individual to become comfortable with his/her sexual response and arousal without the added pressure of performance anxiety commonly heightened by concern for his/her partner’s pleasure, reactions, concerns, and/or fears. For many individuals, a cognitive reframing of masturbation to self-stimulation or self-pleasuring allows the individual to accept this activity as part of the process in sexual rehabilitation. For others, this behavior may still be a resilient and persistent taboo for cultural and religious reasons.

For those couples who wish to have sexual intercourse, sexual positions that place no weight on a scar or ostomy and positions that allow better control of depth of penetration can be explored. The side-by-side position (spooning) in which the man is behind the woman, or the L-shaped position, with both partners lying down, torsos at right angles and legs entwined, are two possibilities. Comprehensive pamphlets on sexuality and cancer, for both men [3] and women,[4] provide illustrations of sexual positions and other self-help information.

For patients with colostomies or ileostomies, pamphlets are available from national organizations related to resuming sexual activity including topics such as sex and the female ostomate, sex and the male ostomate, and gay and lesbian ostomates. Providers can educate patients on limiting food intake before anticipated sexual activity, watching the types of food consumed, and planning times for intimacy when a bowel movement is less likely. Although the ostomy pouch is typically changed when about one-third full, patients should be taught to empty the pouch sooner when anticipating sexual intimacy. Patients may fear that the ostomy bag will interfere with sexual intimacy, become dislodged, or cause damage to the stoma. An empty and flat ostomy bag will not become dislodged from the stoma and can be rolled up or taped down so that it will not get in the way of sexual intimacy. Decorative covers may also be worn.[5,6][Level of evidence: IV] A wide selection of products for ostomates is available, including disposable pouches, reusable pouches that empty from the bottom or top while still attached, pouches with filters to control odors, and pouches that hang sideways instead of down for physical activity. Patients concerned about potential odor can use deodorant tablets or liquids in the bottom of the pouch or as recommended by the manufacturer.[6]

Providers can help educate couples by offering practical suggestions to overcome changes in responsiveness to sexual stimulation. Couples should allow plenty of time for sexual expression with sufficient foreplay to develop the fullest possible sexual arousal. For some couples, early morning may be a good restful time for sexual expression. Conditions that facilitate sexual pleasure should be explored and may include relaxation, dreams, fantasy, deep breathing, and recalling positive experiences with the partner.

Erection problems are the most common sexual dysfunction for which men seek help after cancer treatment. Many men with erectile dysfunction are able to have an orgasm with oral or manual stimulation; many partners are satisfied and orgasmic with noncoital stimulation. If the desire for intercourse remains, there are several treatment options available for erectile dysfunction, depending on the cause and degree of dysfunction. Only a small percentage of men with erection problems seek help.[7,8]

With the advent of sildenafil (Viagra), a phosphodiesterase-5 (PDE-5) inhibitor used to treat erection problems,[9] the percentage of men who seek treatment for erection problems has increased. Despite the publicity about the effectiveness of sildenafil, the drug works best in men with the mildest forms of erectile dysfunction. Many men will be unable to achieve adequate erections by taking this drug alone. The use of sildenafil enables about 72% of men with nerve-sparing prostatectomy and 15% of men with non–nerve-sparing prostatectomy to achieve erections sufficient for vaginal intercourse.

Radical prostatectomy can result in nerve injury, in addition to vascular and smooth muscle damage. Injury and prolonged flaccidity of the penis can result in hypo-oxygenation of the penile tissue, further complicating structural integrity and compromising future erectile function.[10] The process of healing after surgery takes approximately 3 to 6 months, and full recovery can be expected at 1 year postsurgery. However, during this time, it is important for men to continue to have erections to keep the tissue healthy with adequate blood flow and to improve their future ability to have adequate erections. Therefore, early penile rehabilitation is recommended.[11]

In one nonrandomized study, 84 men who had undergone nerve-sparing radical prostatectomy could choose whether to start early rehabilitation or to wait.[12] In this study, early rehabilitation was defined as beginning activities to achieve erections within 6 months of radical prostatectomy, while delayed rehabilitation was defined as starting such activities more than 6 months after radical prostatectomy. Rehabilitation consisted of the use of sildenafil citrate, 100 mg, on four occasions. If erection sufficient for vaginal penetration was not achieved, then men were encouraged to use penile injections to obtain erections. Those who responded well to sildenafil citrate continued using this agent. Forty-eight men chose early rehabilitation, and 36 men chose delayed rehabilitation. The men were matched for age, comorbidities, and baseline erectile function, with a mean age of 58 years. Outcomes were evaluated with the International Index of Erectile Function (IIEF) and were assessed presurgery and at 1 and 2 years postsurgery. Trends for better scores on the IIEF were seen at 1 year, but statistically significant differences were not realized until year 2, with significantly more men in the early rehabilitation arm having unassisted functional erections (48% vs. 33%) and more men in the early group having functional erections with sildenafil (76% vs. 45%). Twenty-four percent of men in the early rehabilitation group had normal erectile function scores as measured by the IIEF, compared to 8% of men in the delayed rehabilitation group.[12][Level of evidence: II] Some data suggest that about 12% of sildenafil responders lose efficacy by 3 years.[13][Level of evidence: III]

In a study of brachytherapy in the treatment of localized prostate cancer, sildenafil improved potency in 62% to 70% of patients.[14] Patients who were not being treated with androgen therapy had a significantly better response.[15] Similarly, of men who became impotent after brachytherapy for prostate cancer,[16] 85% to 88% responded with improved erectile function when taking sildenafil. Reported potency rates after prostate brachytherapy are high; a 3-year follow-up study demonstrated that 80% of patients were able to have erections adequate for satisfactory sexual activity with or without sildenafil.[17][Level of evidence: II] Sildenafil has also improved erectile function for patients with partial parasympathetic nerve disruption from rectal surgery.[18][Level of evidence: I][19][Level of evidence: II] No other treatment for erectile dysfunction has a high rate of patient acceptance. Sildenafil has been studied in a novel primary prevention modality using nightly administration after a bilateral nerve-sparing prostatectomy. This approach effected a sevenfold improvement in return of spontaneous, normal erectile function 2 months after discontinuation of the drug.[20][Level of evidence: IV] The authors state that this effect appears to be mediated by properties unique to sildenafil that include improved endothelial function and neuronal regeneration and neuroprotection.[20]

Published data also suggest that early use of sildenafil after radical retropubic prostatectomy may preserve intracorporeal smooth muscle content;[21][Level of evidence: II] although this effect on the return of potency is not known, maintaining the pro-erectile ultrastructure is integral to rehabilitating erectile function after radical retropubic prostatectomy.[21] Data on the efficacy of early postoperative erectile treatment rely on very few randomized trials. Because the natural recovery of erectile function has been reported to take as long as 2 years,[22] larger randomized trials with at least 2 years of follow-up are needed before definitive conclusions can be drawn about the true efficacy of rehabilitative sexual therapy for postoperative erectile function.

Three PDE-5 inhibitors approved by the U.S. Food and Drug Administration (FDA) are on the market:

- Viagra (sildenafil).
- Levitra (vardenafil).
- Cialis (tadalafil).

Although all three of these oral medications are PDE-5 inhibitors, they are not the same. No trials have been published that compare sildenafil, vardenafil, and tadalafil. It appears that all three agents are similar in efficacy, helping 60% to 70% of patients with erectile dysfunction.[23][Level of evidence: I][24,25] However, comparisons of the efficacy of the PDE-5 inhibitors are complicated by the heterogeneity of the populations studied, the varied primary cancer therapies employed, different timing in measuring outcomes in the clinical trials, and variance in the endpoints used to determine efficacy. Furthermore, most of these trials were industry sponsored.

The major contraindications for use of a PDE-5 inhibitor are concurrent use of nitrates or the alpha-blockers terazosin (Hytrin) and doxazosin (Cardura). The major difference in the three approved inhibitors is that tadalafil has a considerably longer serum half-life, which provides both a larger window of opportunity and potential side effects.[24,25]

Because it was approved in 1998, there is far more research on the use of sildenafil than on the use of the other PDE-5 inhibitors in oncology patients; vardenafil and tadalafil were approved in 2003. Tadalafil was investigated in the treatment of erectile dysfunction following bilateral nerve-sparing radical retropubic prostatectomy. Results from this randomized, double-blind, placebo-controlled, multicenter study found that 71% of patients randomly assigned to receive tadalafil reported improved erections.[26][Level of evidence: I] Vardenafil had been investigated in the treatment of erectile dysfunction after radical retropubic prostatectomy and following nerve-sparing radical prostatectomy.[27,28][Level of evidence: I]

In post–radical retropubic prostatectomy patients, the average intercourse success rate per patient receiving 20 mg of vardenafil was 74% in men with mild to moderate erectile dysfunction and 28% in men with severe erectile dysfunction, compared with 49% and 4% for placebo.[27] Patients receiving 10-mg and 20-mg doses of vardenafil following nerve-sparing radical prostatectomy reported significantly greater intercourse satisfaction, orgasmic function, and overall satisfaction rate with hardness on the IIEF, compared with those receiving placebo.[28]

Therapies such as penile injections, vacuum devices, or intraurethral medication have extremely high dropout rates, and of men who seek help at clinics for erectile dysfunction, only about one-third feel long-term satisfaction, despite trying a mean of two different treatment modalities.[29-31][Level of evidence: II][32] For men who have a suboptimal response to oral therapies after radical retropubic prostatectomy, the use of combined intracorporal injection (ICI) and a PDE-5 inhibitor has been shown to improve erectile function. One retrospective study found that among men who experienced erectile dysfunction after nerve-sparing retropubic prostatectomy, 68% who combined ICI with either sildenafil or vardenafil reported improved erectile function. On follow-up, 36% of these patients used ICI therapy only intermittently, as they reportedly felt that this was adequate for good results.[33][Level of evidence: III]

Rates of long-term satisfaction are superior for penile prosthesis surgery,[34-36] but with less invasive and permanent treatments available, fewer men choose this treatment modality, particularly after undergoing intensive cancer therapy.[37] The role of the man’s partner in prompting him to try a treatment or to keep on using it is also poorly understood. When erectile functioning is impaired, counseling will initially focus on obtaining sexual pleasure and satisfaction without erections or intercourse. For men with postsurgical erectile dysfunction, there is the possibility for improved function over time as nerves may potentially regenerate for up to 2.5 years after surgery.[6] Providers may educate patients that opting to use no medical intervention to restore erections is also a valid choice. Comprehensive reviews of the current management of erectile dysfunction are available.[38-42] Also, several authors [39,43,44] provide further discussion on the management of inhibited sexual desire and other male sexual dysfunctions.

When women experience changes in arousal, most notably vaginal dryness and irritation, vaginal moisturizers (e.g., Replens) and water-based lubricants (e.g., Astroglide and K-Y Liquid) may be suggested, especially in women who cannot use estrogen replacement. The approval of the estradiol-releasing vaginal ring (Estring), containing a slow-release preparation, 2 mg of micronized 17-beta-estradiol, may also provide a less risky alternative to systemic estrogen replacement for women with postmenopausal vaginal atrophy.[45][Level of evidence: I][46] Estring has demonstrated a decreased recurrence of urinary tract infections in postmenopausal women and a significant maturing effect on vaginal and urethral mucosal cells, decreasing the urogenital symptoms of postmenopausal women.[47][Level of evidence: I]

Another alternative to local estrogen replacement is the first-available 25-μg 17-beta-estradiol vaginal tablet (Vagifem). A study comparing Vagifem tablets with 1.25-mg conjugated equine estrogen vaginal cream (Premarin) found both to be equivalent in relieving symptoms of atrophic vaginitis, with patients who received Vagifem experiencing less endometrial proliferation or hyperplasia. This study also found that women rated vaginal tablets more favorably than vaginal cream.[48][Level of evidence: I] The long-term safety of the use of vaginal estrogens by women who should avoid estrogens has not been determined.

If changes in arousal are also associated with the endocrine changes of menopause, the option and evaluation of hormone replacement may be discussed. Some women may experience discomfort with penetration around the vaginal entrance and can learn to relax the pubococcygeus muscles with Kegel exercises.[38,49,50] Women who have lost vaginal depth or caliber as a result of pelvic surgery, radiation therapy, or graft-versus-host disease may also benefit from a program of inserting vaginal dilators of gradually increasing sizes, and at the same time, learning exercises to better relax the muscles surrounding the vaginal entrance.[38,51] Some women may also benefit, at least in the short term after cancer treatment, from lubricant or anesthetic gels to prevent pain in tender, dry vulvar areas.[52][Level of evidence: I]

The FDA approved a nonpharmaceutical device to aid sexual arousal in women. The EROS clitoral therapy device (EROS-CTD) creates a gentle suction over the clitoris to increase blood flow and sensation. This device is only available by prescription and is clinically indicated for the treatment of female sexual dysfunction. It is expected to be particularly effective in postmenopausal women, women who have had hysterectomies, and those women who have surgically induced menopause.[53] The efficacy of EROS therapy has been supported by several small pilot studies,[54][Level of evidence: III][55,56] one of which specifically examined its efficacy in alleviating the symptoms of sexual dysfunction among women with a history of irradiated cervical cancer.[55][Level of evidence: II] Three months posttherapy, this study found statistically significant improvements in all domains evaluated, which included increased sexual desire, arousal, lubrication, orgasm, sexual satisfaction, and reduced pain. Additionally, follow-up gynecological examinations revealed improved vaginal elasticity, mucosal color, and moisture and decreased bleeding and ulceration. Randomized controlled trials are warranted to fully assess the benefits of EROS therapy.

More specific information for the evaluation and treatment of female sexual dysfunction, including painful intercourse (i.e., dyspareunia), vaginismus, inhibited orgasm, and sexual arousal and desire disorders, is available in other resources.[39,49,57,58]

For both men and women, a persistent and complex sexual problem is loss of desire for sex after cancer treatment. In men who have not had prostate cancer and have clinically low levels of serum testosterone, replacement by injection or patch is often effective in restoring normal sexual function. Testosterone replacement tends to have little effect, however, if given to a man whose own hormone levels fall within the normal range. Safety, dosage, and delivery systems for androgen replacement in women need to be studied. Numerous studies have evaluated the use of transdermal testosterone in various populations.[59-65][Level of evidence: I] These populations include women who have hypoactive sexual desire disorder who have had oophorectomies, who are naturally postmenopausal, who are premenopausal, and who have a history of cancer. These studies used doses ranging from 150 μg to 10 mg daily. Most of the studies in women have used concomitant estradiol supplementation if estrogen levels fell outside the normal premenopausal range and found that testosterone supplementation significantly improved libido outcomes.

Only two published studies have evaluated transdermal testosterone for libido in postmenopausal women without estrogen supplementation. One of these studies was in cancer survivors,[66] and the other was in postmenopausal women who were diagnosed with hypoactive sexual desire disorder.[67][Level of evidence: I] The clinical trial in cancer survivors showed that in 150 female cancer survivors randomly assigned to receive either 10 mg of transdermal testosterone daily or placebo for 4 weeks, there was no statistically significant difference in improvement in sexual desire as measured by a validated sexual function scale, the Changes in Sexual Functioning Questionnaire, despite the fact that androgen levels improved significantly in the women receiving the testosterone but remained unchanged in the women receiving placebo. The other clinical trial randomly assigned 814 postmenopausal women to receive either 150 µg or 300 µg of transdermal testosterone versus placebo for a year (without estrogen), with an efficacy endpoint of 24 weeks looking at satisfying sexual episodes captured in activity logs. Authors reported a significant improvement of about one additional satisfying sexual episode over a 4-week period in the 300-µg group compared with placebo, but not in the 150-µg group. Upon further analysis, it was found that women who had experienced surgical menopause, having had their ovaries removed, did not benefit from this intervention. This raises the questions of whether ovarian status in women who have been treated for cancer with chemotherapy is more like surgical or natural menopause, and whether the chemotherapy-induced menopausal ovary functions with an active stroma or has no activity after chemotherapy, akin to surgical removal. Research in this area is needed to better understand the entire hormonal milieu of women after cancer treatment and how all of the hormone changes work together to impact symptoms. Therefore, it is not clear that testosterone alone, in the absence of estrogen, can positively impact libido.

For women who have breast cancer, the safety of giving androgens is unknown. Serum androgens can be aromatized to estrogen. Data from epidemiologic studies suggest there may be an increased risk of breast cancer with higher concentrations of endogenous androgens.[68 ,69] However, endogenous androgens present over a life span do not equal exogenous androgen supplementation for a woman with low androgen concentrations. One small study evaluating the effects of testosterone supplementation on breast tissue found that the addition of testosterone to estrogen and progesterone inhibited the breast proliferation exhibited in the group that received estrogen, progesterone, and placebo.[70][Level of evidence: I] Furthermore, one case-controlled study in more than 8,000 women found that the use of exogenous testosterone for 4 years did not result in an increased incidence of breast cancer, despite the fact that 83% of testosterone users were also using estrogen replacement compared with only 15% of the age-matched controls.[71][Level of evidence: III] Therefore, many unanswered questions remain about sufficient androgen levels for adequate sexual function as well as short- and long-term safety. To date, there are no compelling data to support the use of testosterone alone to improve libido in women who are estrogen deficient.

Because loss of desire often is multifactorial, an approach that includes psychological assessment and treatment is usually optimal. An experienced mental health professional can rule out a mood disorder as a factor in loss of desire and can explore the interactions of factors such as the following:

- Changes in relationship dynamics.
- Loss of physical well-being.
- Changes in sexual self-concept.
- Negative body image.

The effects of prescription medications, chemical dependency, or hormonal abnormalities can be recognized and targeted for change. Unfortunately, there is no true aphrodisiac medication that can restore sexual desire in the presence of a normal hormonal environment.

In general, a variety of treatment modalities are available for sexual dysfunction after cancer. For many problems, providing information and suggestions for behavior change in a self-help format may be sufficient. Education can be provided via books,[38] pamphlets,[3,4] CD-ROMs, videos, peer counselors,[72][Level of evidence: I] or Internet interactions. For men and women with more complex and severe problems, professional intervention will be more effective. Future research needs to explore which treatment components are most effective with particular groups of patients. A psychoeducational intervention was evaluated in women with a history of breast cancer.[73][Level of evidence: I] The intervention content addressed the following:

- Sexual anatomy.
- Body image.
- Attitudes and behavior.
- Communication.
- Ways to enhance sexual function.

The intervention was delivered in person, in groups, at 2-hour sessions over a 6-week period. The primary outcome was the Mental Health Index, providing a measure of anxiety, depression, loneliness, distress, well-being, and positive affect. Other outcomes included sexual satisfaction, self-image, and functioning, such as dyspareunia. Women were identified through a mailed survey and randomly assigned ahead of time either to the intervention or to the control group (written material only). Women randomly assigned to the intervention were then invited to participate. Of 284 women assigned to the intervention, only 83 agreed to participate; of those, only 72 attended any of the sessions. The most common reasons for declining participation were inconvenient time and/or location, being too busy, or feeling that the intervention was not needed. One hundred twenty-seven women were randomly assigned to the control group, and follow-up was reported for 98 of them.[73]

Results from this study are presented for three groups:

- Control group.
- Intervention nonparticipants.
- Intervention participants.

An intent-to-treat analysis showed no significant differences between groups for the Mental Health Index. However, there was an intervention effect for general satisfaction with sex. An as-treated analysis did suggest improvement on the Mental Health Index, with women who reported more distress at baseline experiencing more benefit.[73] This study provides data to support the idea that interventions focusing on psychosocial and cognitive factors may be an important component of interventions to improve emotional and sexual outcomes. However, more research is needed to develop psychoeducational interventions that are less time intensive, can be disseminated easily, and are more readily accepted by cancer survivors.

Sexual counseling can be provided for individuals, couples, or groups. The effectiveness of these different formats has not been compared for people with cancer. It is also not known whether brief counseling can enhance the impact of medical treatments, such as those used to overcome erectile dysfunction or dyspareunia. There is limited research about the impact of support groups on sexual outcomes for men with prostate cancer.[74][Level of evidence: II] It is likely that associations between better outcomes and participation in support groups reflect baseline sociographic and clinical differences between those who participate in support groups and those who do not.

### Current Clinical Trials

Check the list of NCI-supported cancer clinical trials for supportive and palliative care trials about sexuality and reproductive issues (http://www.cancer.gov/search/ClinicalTrialsLink.aspx?Diagnosis=37817&tt=2&format=2) and sexual dysfunction (http://www.cancer.gov/search/ClinicalTrialsLink.aspx?Diagnosis=41403&tt=2&format=2) that are now accepting participants. The list of trials can be further narrowed by location, drug, intervention, and other criteria.

General information about clinical trials is also available from the NCI website (http://www.cancer.gov/about-cancer/treatment/clinical-trials).

### References

Masters WH, Johnson VE: Human Sexual Response. Boston, Mass: Little, Brown and Company, 1966.
Kaplan HS: The New Sex Therapy: Active Treatment of Sexual Dysfunctions. New York, NY: Brunner/Mazel, 1974.
Schover LR: Sexuality and Cancer: For the Man Who Has Cancer, and His Partner. Atlanta, Ga: American Cancer Society, Inc, 1999.
Schover LR: Sexuality and Cancer: For the Woman Who Has Cancer, and Her Partner. Atlanta, Ga: American Cancer Society, Inc, 1999.
Grunberg KJ: Sexual rehabilitation of the cancer patient undergoing ostomy surgery. J Enterostomal Ther 13 (4): 148-52, 1986 Jul-Aug.3636348 86251734
Snow B: The ostomist: self image and sexual problems. Sex Disabil 3 (3): 156-58, 1980.
Bates TS, Wright MP, Gillatt DA: Prevalence and impact of incontinence and impotence following total prostatectomy assessed anonymously by the ICS-male questionnaire. Eur Urol 33 (2): 165-9, 1998.9519358 98179884
Shrader-Bogen CL, Kjellberg JL, McPherson CP, et al.: Quality of life and treatment outcomes: prostate carcinoma patients' perspectives after prostatectomy or radiation therapy. Cancer 79 (10): 1977-86, 1997.9149026 97292973
Goldstein I, Lue TF, Padma-Nathan H, et al.: Oral sildenafil in the treatment of erectile dysfunction. Sildenafil Study Group. N Engl J Med 338 (20): 1397-404, 1998.9580646 98234126
Mulhall JP: Penile rehabilitation following radical prostatectomy. Curr Opin Urol 18 (6): 613-20, 2008.18832948
Mulhall JP, Bella AJ, Briganti A, et al.: Erectile function rehabilitation in the radical prostatectomy patient. J Sex Med 7 (4 Pt 2): 1687-98, 2010.20388165
Mulhall JP, Parker M, Waters BW, et al.: The timing of penile rehabilitation after bilateral nerve-sparing radical prostatectomy affects the recovery of erectile function. BJU Int 105 (1): 37-41, 2010.19659465
Raina R, Lakin MM, Agarwal A, et al.: Long-term effect of sildenafil citrate on erectile dysfunction after radical prostatectomy: 3-year follow-up. Urology 62 (1): 110-5, 2003.12837433
Raina R, Agarwal A, Goyal KK, et al.: Long-term potency after iodine-125 radiotherapy for prostate cancer and role of sildenafil citrate. Urology 62 (6): 1103-8, 2003.14665364
Potters L, Torre T, Fearn PA, et al.: Potency after permanent prostate brachytherapy for localized prostate cancer. Int J Radiat Oncol Biol Phys 50 (5): 1235-42, 2001.11483334 21376178
Merrick GS, Butler WM, Galbreath RW, et al.: Erectile function after permanent prostate brachytherapy. Int J Radiat Oncol Biol Phys 52 (4): 893-902, 2002.11958881 21956643
Mabjeesh N, Chen J, Beri A, et al.: Sexual function after permanent 125I-brachytherapy for prostate cancer. Int J Impot Res 17 (1): 96-101, 2005 Jan-Feb.15510186
Lindsey I, George B, Kettlewell M, et al.: Randomized, double-blind, placebo-controlled trial of sildenafil (Viagra) for erectile dysfunction after rectal excision for cancer and inflammatory bowel disease. Dis Colon Rectum 45 (6): 727-32, 2002.12072621 22067416
Merrick GS, Wallner K, Butler WM, et al.: A comparison of radiation dose to the bulb of the penis in men with and without prostate brachytherapy-induced erectile dysfunction. Int J Radiat Oncol Biol Phys 50 (3): 597-604, 2001.11395225 21289020
Padma-Nathan H, McCullough A, Forest C: Erectile dysfunction secondary to nerve-sparing radical retropubic prostatectomy: comparative phosphodiesterase-5 inhibitor efficacy for therapy and novel prevention strategies. Curr Urol Rep 5 (6): 467-71, 2004.15541217
Schwartz EJ, Wong P, Graydon RJ: Sildenafil preserves intracorporeal smooth muscle after radical retropubic prostatectomy. J Urol 171 (2 Pt 1): 771-4, 2004.14713808
McCullough AR: Prevention and management of erectile dysfunction following radical prostatectomy. Urol Clin North Am 28 (3): 613-27, 2001.11590817
Incrocci L, Slagter C, Slob AK, et al.: A randomized, double-blind, placebo-controlled, cross-over study to assess the efficacy of tadalafil (Cialis) in the treatment of erectile dysfunction following three-dimensional conformal external-beam radiotherapy for prostatic carcinoma. Int J Radiat Oncol Biol Phys 66 (2): 439-44, 2006.16965992
Shabsigh R: Therapy of ED: PDE-5 Inhibitors. Endocrine 23 (2-3): 135-41, 2004 Mar-Apr.15146092
Whitehill D: Viagra, Levitra, and Cialis: what's the difference? S D J Med 58 (4): 129-30, 2005.15861599
Montorsi F, Althof SE: Partner responses to sildenafil citrate (Viagra) treatment of erectile dysfunction. Urology 63 (4): 762-7, 2004.15072897
Brock G, Nehra A, Lipshultz LI, et al.: Safety and efficacy of vardenafil for the treatment of men with erectile dysfunction after radical retropubic prostatectomy. J Urol 170 (4 Pt 1): 1278-83, 2003.14501741
Nehra A, Grantmyre J, Nadel A, et al.: Vardenafil improved patient satisfaction with erectile hardness, orgasmic function and sexual experience in men with erectile dysfunction following nerve sparing radical prostatectomy. J Urol 173 (6): 2067-71, 2005.15879836
Dewire DM, Todd E, Meyers P: Patient satisfaction with current impotence therapy. Wis Med J 94 (10): 542-4, 1995.8560907 96072421
Jarow JP, Nana-Sinkam P, Sabbagh M, et al.: Outcome analysis of goal directed therapy for impotence. J Urol 155 (5): 1609-12, 1996.8627834 96186035
Hanash KA: Comparative results of goal oriented therapy for erectile dysfunction. J Urol 157 (6): 2135-8, 1997.9146600 97292060
Levine LA: External devices for treatment of erectile dysfunction. Endocrine 23 (2-3): 157-60, 2004 Mar-Apr.15146095
Mydlo JH, Viterbo R, Crispen P: Use of combined intracorporal injection and a phosphodiesterase-5 inhibitor therapy for men with a suboptimal response to sildenafil and/or vardenafil monotherapy after radical retropubic prostatectomy. BJU Int 95 (6): 843-6, 2005.15794795
Sexton WJ, Benedict JF, Jarow JP: Comparison of long-term outcomes of penile prostheses and intracavernosal injection therapy. J Urol 159 (3): 811-5, 1998.9474156 98134431
Lewis RW: Long-term results of penile prosthetic implants. Urol Clin North Am 22 (4): 847-56, 1995.7483133 96073602
Milbank AJ, Montague DK: Surgical management of erectile dysfunction. Endocrine 23 (2-3): 161-5, 2004 Mar-Apr.15146096
Schover LR, Fouladi RT, Warneke CL, et al.: The use of treatments for erectile dysfunction among survivors of prostate carcinoma. Cancer 95 (11): 2397-407, 2002.12436448 22322826
Schover LR: Sexuality and Fertility After Cancer. New York, NY: John Wiley and Sons, 1997.
Kaplan HS: The Evaluation of Sexual Disorders: Psychological and Medical Aspects. New York, NY: Brunner/Mazel Inc, 1983.
Lue TF: Contemporary Diagnosis and Management of Male Erectile Dysfunction. Newton, Pa: Handbooks in Health Care, 1999.
Costabile RA: Cancer and male sexual dysfunction. Oncology (Huntingt) 14 (2): 195-200, 203; discussion 203-5, 2000.10736808 20201047
Rivas DA, Chancellor MB: Management of erectile dysfunction. In: Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997, pp 429-464.
Ducharme SH, Gill KM: Management of other male sexual dysfunctions. In: Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997, pp 465-486.
Zilbergeld B: The New Male Sexuality. New York, NY: Bantam Books, 1992.
Ayton RA, Darling GM, Murkies AL, et al.: A comparative study of safety and efficacy of continuous low dose oestradiol released from a vaginal ring compared with conjugated equine oestrogen vaginal cream in the treatment of postmenopausal urogenital atrophy. Br J Obstet Gynaecol 103 (4): 351-8, 1996.8605133 96182166
Baker VL: Alternatives to oral estrogen replacement. Transdermal patches, percutaneous gels, vaginal creams and rings, implants, other methods of delivery. Obstet Gynecol Clin North Am 21 (2): 271-97, 1994.7936545 95022523
Eriksen B: A randomized, open, parallel-group study on the preventive effect of an estradiol-releasing vaginal ring (Estring) on recurrent urinary tract infections in postmenopausal women. Am J Obstet Gynecol 180 (5): 1072-9, 1999.10329858 99261785
Rioux JE, Devlin C, Gelfand MM, et al.: 17beta-estradiol vaginal tablet versus conjugated equine estrogen vaginal cream to relieve menopausal atrophic vaginitis. Menopause 7 (3): 156-61, 2000 May-Jun.10810960 20269097
Roth AJ, Carter J, Nelson CJ: Sexuality after cancer. In: Holland JC, Breitbart WS, Jacobsen PB, et al., eds.: Psycho-oncology. 2nd ed. New York, NY: Oxford University Press, Inc., 2010, pp 245-50.
Lamb MA: Sexuality and Sexual Functioning. In: McCorkle R, Grant M, Frank-Stromborg M, et al., eds.: Cancer Nursing: A Comprehensive Textbook. 2nd ed. Philadelphia, Pa: WB Saunders Co, 1996, pp 1105-1127.
Parkinson N, Pratt H: Clinical nurse specialists and the psychosexual needs of patients with gynaecological cancer. J Br Menopause Soc 11 (1): 33-5, 2005.15814061
Ganz PA, Greendale GA, Petersen L, et al.: Managing menopausal symptoms in breast cancer survivors: results of a randomized controlled trial. J Natl Cancer Inst 92 (13): 1054-64, 2000.10880548 20341837
Josefson D: FDA approves device for female sexual dysfunction. BMJ 320 (7247): 1427, 2000.10827039 20286447
Munarriz R, Maitland S, Garcia SP, et al.: A prospective duplex Doppler ultrasonographic study in women with sexual arousal disorder to objectively assess genital engorgement induced by EROS therapy. J Sex Marital Ther 29 (Suppl 1): 85-94, 2003.12735092
Schroder M, Mell LK, Hurteau JA, et al.: Clitoral therapy device for treatment of sexual dysfunction in irradiated cervical cancer patients. Int J Radiat Oncol Biol Phys 61 (4): 1078-86, 2005.15752887
Wilson SK, Delk JR 2nd, Billups KL: Treating symptoms of female sexual arousal disorder with the Eros-Clitoral Therapy Device. J Gend Specif Med 4 (2): 54-8, 2001.11480099
Kaplan HS: The Sexual Desire Disorders. New York, NY: Brunner/Mazel, Inc, 1995.
Whipple B, McGreer KB: Management of female sexual dysfunction. In: Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997, pp 511-536.
Shifren JL, Braunstein GD, Simon JA, et al.: Transdermal testosterone treatment in women with impaired sexual function after oophorectomy. N Engl J Med 343 (10): 682-8, 2000.10974131 20415412
Goldstat R, Briganti E, Tran J, et al.: Transdermal testosterone therapy improves well-being, mood, and sexual function in premenopausal women. Menopause 10 (5): 390-8, 2003 Sep-Oct.14501599
Braunstein GD, Sundwall DA, Katz M, et al.: Safety and efficacy of a testosterone patch for the treatment of hypoactive sexual desire disorder in surgically menopausal women: a randomized, placebo-controlled trial. Arch Intern Med 165 (14): 1582-9, 2005.16043675
Buster JE, Kingsberg SA, Aguirre O, et al.: Testosterone patch for low sexual desire in surgically menopausal women: a randomized trial. Obstet Gynecol 105 (5 Pt 1): 944-52, 2005.15863529
Simon J, Braunstein G, Nachtigall L, et al.: Testosterone patch increases sexual activity and desire in surgically menopausal women with hypoactive sexual desire disorder. J Clin Endocrinol Metab 90 (9): 5226-33, 2005.16014407
Nathorst-Böös J, Flöter A, Jarkander-Rolff M, et al.: Treatment with percutanous testosterone gel in postmenopausal women with decreased libido--effects on sexuality and psychological general well-being. Maturitas 53 (1): 11-8, 2006.16183220
Shifren JL, Davis SR, Moreau M, et al.: Testosterone patch for the treatment of hypoactive sexual desire disorder in naturally menopausal women: results from the INTIMATE NM1 Study. Menopause 13 (5): 770-9, 2006 Sep-Oct.16932240
Barton DL, Wender DB, Sloan JA, et al.: Randomized controlled trial to evaluate transdermal testosterone in female cancer survivors with decreased libido; North Central Cancer Treatment Group protocol N02C3. J Natl Cancer Inst 99 (9): 672-9, 2007.17470735
Davis SR, Moreau M, Kroll R, et al.: Testosterone for low libido in postmenopausal women not taking estrogen. N Engl J Med 359 (19): 2005-17, 2008.18987368
Inskip PD: Pelvic radiotherapy, sex hormones, and breast cancer. Cancer Causes Control 5 (5): 471-8, 1994.7999969 95092996
Zumoff B: Hormonal profiles in women with breast cancer. Obstet Gynecol Clin North Am 21 (4): 751-72, 1994.7731646 95249203
Hofling M, Hirschberg AL, Skoog L, et al.: Testosterone inhibits estrogen/progestogen-induced breast cell proliferation in postmenopausal women. Menopause 14 (2): 183-90, 2007 Mar-Apr.17108847
van Staa TP, Sprafka JM: Study of adverse outcomes in women using testosterone therapy. Maturitas 62 (1): 76-80, 2009.19108962
Schover LR, Jenkins R, Sui D, et al.: Randomized trial of peer counseling on reproductive health in African American breast cancer survivors. J Clin Oncol 24 (10): 1620-6, 2006.16575013
Rowland JH, Meyerowitz BE, Crespi CM, et al.: Addressing intimacy and partner communication after breast cancer: a randomized controlled group intervention. Breast Cancer Res Treat 118 (1): 99-111, 2009.19390963
Katz D, Koppie TM, Wu D, et al.: Sociodemographic characteristics and health related quality of life in men attending prostate cancer support groups. J Urol 168 (5): 2092-6, 2002.12394716 22281879

## Fertility Issues

Adjuvant radiation therapy and/or chemotherapy introduce higher risks of infertility in patients with cancer. Sterility from these therapies may be temporary or permanent. The occurrence of this toxicity is related to a number of factors including the following:

- Gender.
- Age at the time of treatment.
- Type of therapeutic agent.
- Radiation field.
- Total dose.
- Single versus multiple agents.
- Length of time since treatment.

When treatment-related or disease-related dysfunction is a possibility, every effort should be made to provide adequate information and education on reproduction and fertility. Conveying such information can be complicated, especially in younger pediatric cancer patients. Children may be too young to comprehend the implications of treatment on fertility. Additionally, in some instances, parents may decide to shelter children from such discussions.[1]

Existing literature suggests that only about half of men and women of child-bearing age receive the information they need from their health care providers about cancer-related infertility at the time of diagnosis and treatment planning.[2] This lack of information is one of the most common reasons men give for failing to bank sperm.[2] To address this issue, a computerized interactive educational tool for patients, families, and physicians called Banking on Fatherhood after Cancer (http://sbir-cancercontrol.cancer.gov/sbir/viewProduct.do?prodId=56385) is under development and will be viewable on CD-ROM or over the Internet.[2]

### Chemotherapy

With regard to chemotherapy, the extent of damage to a patient's fertility depends on the agent administered, the doses received, and the patient's age at the time of treatment. Age is an important factor, and the possibility of gonadal recovery improves with the length of time off chemotherapy. The germinal epithelium of the adult testis is more susceptible to damage than that of the prepubertal testis.[3] The evidence to date (largely from adjuvant studies) suggests that patients older than 35 to 40 years are most susceptible to the ovarian effects of chemotherapy. The ovaries of younger women can tolerate greater doses.[4] Predicting the outcome for any individual patient is difficult, as the course of ovarian functioning following chemotherapy is variable.[3] Relative risk of ovarian failure and testicular damage from cytotoxic agents has been studied, and the alkylating agents have subsequently been shown to be damaging to fertility. The following agents have been shown to be gonadotoxic: [3,5-8]

- Busulfan.
- Melphalan.
- Cyclophosphamide.
- Nitrosoureas.
- Cisplatin.
- Chlorambucil.
- Mustine.
- Carmustine.
- Lomustine.
- Cytarabine.
- Ifosfamide.
- Procarbazine.

In addition to these alkylating agents, vinblastine, cytarabine, cisplatinum, and procarbazine have also been reported to be gonadotoxic in male and female patients.[9]

Chemotherapy regimens for the treatment of non-Hodgkin lymphoma are generally less gonadotoxic than those used for Hodgkin lymphoma.[3] The addition of adjuvant endocrine therapy in patients older than 40 years was more likely to result in permanent chemotherapy-related amenorrhea.[10] The effects of chemotherapy on testicular function have also been widely studied in patients with testicular cancer. One review reported that more than half of the patients with testicular germ cell cancer showed impaired spermatogenesis before undergoing cytotoxic treatment. Permanent infertility is ultimately defined by dose of cisplatin in these patients. At doses lower than 400 mg/m^2^, long-term effects on endocrine function and sperm production are unlikely to occur. Higher doses would be expected to cause long-term endocrine-gonadal dysfunction.[11]

Although chemotherapy causes ovarian damage, there appears to be no risk of toxicity to future offspring of women treated with these agents before pregnancy.[9]

### Radiation

When the testes are exposed to radiation, sperm count begins to decrease and, depending on the dosage, temporary or permanent sterility may result.[4] Men who receive radiation to the abdominal or pelvic region may still regain partial or full sperm production, depending on the extent of injury to the testes. Unlike the germinal epithelium, Leydig cell function may be more prone to damage from irradiation in prepubertal life than in adulthood.[3] Testicular radiation with doses higher than 20 Gy is associated with Leydig cell dysfunction in prepubertal boys, while Leydig cell function is usually preserved with doses of as much as 30 Gy in sexually mature males.[12] Exposing the testes to ionizing radiation at a dose lower than 6 Gy causes disturbances of spermatogenesis and altered spermatocytes with recovery periods dependent on dose;[4] doses higher than 6 Gy cause permanent infertility by killing off all stem cells.[13]

For patients with testicular germ cell cancer, using modern radiation techniques (radiation doses <30 Gy to the para-aortic field) and testis shielding providing testis scatter radiation (<30 Gy), radiation-induced impairment of fertility is very unlikely.[11] Sperm counts are typically lowest at 4 to 6 months posttreatment; return to pretreatment levels usually occurs in 10 to 24 months, with longer periods required for recovery after higher doses.[9] Total-body irradiation (TBI) as a conditioning regimen for stem cell transplantation causes permanent gonadal failure in approximately 80% of men.[14] For men, gonadal toxicity can be evidenced by the following three measurements:

- Testicular biopsy.
- Serum hormone assays (levels).
- Semen analysis.

When male infertility is the result of abnormal hormone production, the use of hormone manipulation may lead to the return of sperm production.[15]

For women, a radiation dose of 5 Gy to 20 Gy administered to the ovary is sufficient to completely impair gonadal function, regardless of the patient’s age; a dose of 30 Gy provokes premature menopause in 60% of women younger than 26 years.[16] In a study of children and adolescents diagnosed with cancer, female 5-year survivors were significantly less likely to have ever been pregnant when compared with their siblings. Survivors who received hypothalamic/pituitary radiation doses of 30 Gy or higher or ovarian/uterine radiation doses higher than 5 Gy and those who were treated with lomustine or cyclophosphamide were less likely to have ever been pregnant.[17] Women who are older than 40 years when undergoing treatment have a smaller pool of remaining oocytes and require only 5 to 6 Gy to produce permanent ovarian failure. TBI, when used before stem cell transplantation, is associated with more than 90% permanent gonadal failure in women overall and an incidence of pregnancy less than 3%.[9] The outlook for recovery of ovarian function before puberty is more favorable, particularly if radiation is delivered in several fractions.[14] Measurement of gonadal toxicity in women is more difficult to assess due to the relative inaccessibility of the ovary to biopsy (which would require laparoscopy). Therefore, the criteria most commonly used to determine ovarian failure are the following:

- Menstrual and reproductive history.
- Measurements of serum hormone levels.
- Clinical evidence of ovarian function.

Several authors provide reviews of gonadal dysfunction in patients receiving chemotherapy [15] and the effect of cancer therapy on gonadal function.[4]

### Preventive Strategies

For women, studies [18] have shown that movement of the ovaries out of the field of radiation (ovariopexy)—laterally, toward the iliac crest, or behind the uterus—may help preserve fertility when high doses of radiation therapy are being applied. By relocating the ovaries laterally it is possible to shield them during radiation of the para-aortic and femoral lymph nodes.[4] Pelvic radiation, however, still provokes an irradiation of the ovary of 5% to 10%, even if transposed outside the irradiation area.[16] Similar prevention strategies are available for men. When possible, lead shields are used to protect the testes.[4]

### Procreative Alternatives

When feasible and relative to the necessity of treatment, oncology professionals will discuss reproductive cell and tissue banking with patients, referring to a reproductive endocrinologist before chemotherapy and/or radiation. Men can store sperm from the following: [19-22]

- Semen ejaculate.
- Epididymal aspirate.
- Testicular aspirate.
- Testicular biopsy.

Women can store ovarian tissue, ovarian follicles, and embryos.[23,24][Level of evidence: II] In oocyte cryopreservation, which is still experimental,[25] reproductive cells/tissue are cryopreserved for future use in artificial insemination for patients who wish to protect their reproductive capacity.

One published case report describes a live birth after in vitro fertilization of thawed cryopreserved ovarian cortical tissue into the ovaries of a 28-year-old woman who experienced ovarian failure secondary to high-dose chemotherapy for non-Hodgkin lymphoma.[26][Level of evidence: III] For this case, ovarian tissue (containing many primordial follicles) was harvested after administration of a second-line conventional therapy regimen and before treatment with high-dose chemotherapy. Since this time, work has continued to advance technology related to the preservation of unfertilized eggs and ovarian tissue cryopreservation.

More data have been published from clinics using preservation of unfertilized eggs, an important option for unpartnered, fertile women at the time of cancer diagnosis and treatment. The New York University (NYU) Fertility Center reported an ongoing/delivered pregnancy rate of 57% using oocyte cryopreservation.[27] The authors state that this rate is better than the U.S. rate for conventional in vitro fertilization using fresh (as opposed to cryopreserved) oocytes. They also report that this success rate was similar to that for age-matched controls who underwent conventional in vitro fertilization at the NYU Fertility Center.[27] There is likely a good deal of variability in the expertise and success rates of fertility centers using these newer strategies. When options for patients are being investigated, critical review is needed.

These options may not be appropriate for all patients. Counseling is an important part of the decision-making process for patients. Thinking through these decisions at a time when patients are struggling with issues of life and potential death are often difficult. Patients need to consider costs, stress, time, emotions, and potential inclusion of another individual in the pregnancy process (i.e., a surrogate). For many patients, the financial costs associated with in vitro fertilization and subsequent embryo cryopreservation is cost prohibitive. Consideration also needs to be given to the current rate of failure for in vitro fertilization procedures and the potential adverse effect of malignancy on sperm parameters.[25][Level of evidence: III] A retrospective analysis, with a limited sample size, reported that the oocytes from patients with malignant disorders were of a poorer quality and exhibited a significantly impaired fertilization rate compared with age-matched controls.[25] Importantly, data on the outcome of pregnancies in cancer survivors [28][Level of evidence: III] have not shown any increase in genetically mediated birth defects, birth-weight effects, and sex ratios. Based on the evidence thus far, individuals treated with cytotoxic chemotherapy who remain fertile are not at an increased risk of having children with genetic abnormalities.[3] For all patients who wish to be parents and who have permanent infertility, adoption is also a choice.

Men who are treated with sterilizing chemotherapy may have semen cryopreserved, yet utilization remains low.[29][Level of evidence: III] In a 15-year study of 776 men with a variety of malignancies, the cumulative rate of using the cryopreserved semen for assisted conception was less than 10% up to 8 years. Younger age at cryopreservation and a diagnosis of testicular cancer were associated with lower utilization.[30][Level of evidence: III] Despite poor postthawing sperm survival rates, intracytoplasmic sperm injection (ICSI) offers the possibility of a pregnancy even if only a single motile sperm is present after thawing.[31][Level of evidence: IV]

Cryopreservation of sperm is recommended even to oncological patients younger than 15 years (provided these patients can produce a semen sample), as overall success rates (defined as the observation of at least a single motile sperm after the thawing procedure) have been found to be similar to those observed in adults.[32][Level of evidence: III] For men who experience retrograde ejaculation after treatment and remain fertile, it is often possible to retrieve live sperm cells. An infertility specialist can retrieve sperm cells from the testicles and from urine. Testis sperm extraction incorporates the removal of testicular parenchyma with processing and isolation of individual sperm cells. This allows for ICSI in azoospermic men. In a retrospective study, 15 of 23 men who were azoospermic after receiving chemotherapy had retrievable testis sperm leading to successful fertilization. Pregnancies occurred in 31% of cycles. Future research is needed to address whether the offspring produced after ICSI techniques are at increased risk of genetic or congenital malformation.[33][Level of evidence: III]

Medication can sometimes be used to stimulate the remaining nerves around the prostate and seminal vesicles to convert a retrograde ejaculation to an antegrade ejaculation. In the United States, ephedrine sulfate is most often used; in Europe, imipramine is also used. Pharmacologic agents can also be used to induce an ejaculation (i.e., intrathecal neostigmine or subcutaneous physostigmine). When medication does not work, several other techniques are available and may be recommended, including vibratory stimulation, electroejaculation, direct aspiration of fluid from the vas deferens, perineal needle stimulation, and hypogastric-nerve stimulation. Further review of these treatments and information regarding treatment of infertility and assisted reproductive technology is available.[13,34]

Fertility outcomes after therapy of common cancer types (breast cancer, leukemia and lymphoma, cervical cancer, ovarian cancer, endometrial cancer, and testicular cancer) are available in a published review.[9]

### Current Clinical Trials

Check the list of NCI-supported cancer clinical trials for supportive and palliative care trials about fertility assessment and management (http://www.cancer.gov/search/ClinicalTrialsLink.aspx?idtype=5&id=40782&tt=2&format=2) and cryopreservation (http://www.cancer.gov/search/ClinicalTrialsLink.aspx?idtype=5&id=549866&tt=2&format=2) that are now accepting participants. The list of trials can be further narrowed by location, drug, intervention, and other criteria.

General information about clinical trials is also available from the NCI website (http://www.cancer.gov/about-cancer/treatment/clinical-trials).

### References

Zebrack BJ, Casillas J, Nohr L, et al.: Fertility issues for young adult survivors of childhood cancer. Psychooncology 13 (10): 689-99, 2004.15386645
Canada AL, Schover LR: Research promoting better patient education on reproductive health after cancer. J Natl Cancer Inst Monogr (34): 98-100, 2005.15784835
Howell S, Shalet S: Gonadal damage from chemotherapy and radiotherapy. Endocrinol Metab Clin North Am 27 (4): 927-43, 1998.9922915 99121670
Yarbro CH, Perry MC: The effect of cancer therapy on gonadal function. Semin Oncol Nurs 1 (1): 3-8, 1985.3849829 85299892
Fisher B, Dignam J, Mamounas EP, et al.: Sequential methotrexate and fluorouracil for the treatment of node-negative breast cancer patients with estrogen receptor-negative tumors: eight-year results from National Surgical Adjuvant Breast and Bowel Project (NSABP) B-13 and first report of findings from NSABP B-19 comparing methotrexate and fluorouracil with conventional cyclophosphamide, methotrexate, and fluorouracil. J Clin Oncol 14 (7): 1982-92, 1996.8683228 96283116
Goodwin PJ, Ennis M, Pritchard KI, et al.: Risk of menopause during the first year after breast cancer diagnosis. J Clin Oncol 17 (8): 2365-70, 1999.10561298 20030027
Lamb MA: Effects of chemotherapy on fertility in long-term survivors. Dimens Oncol Nurs 5 (4): 13-6, 1991 Winter.1843196 93129376
Longhi A, Macchiagodena M, Vitali G, et al.: Fertility in male patients treated with neoadjuvant chemotherapy for osteosarcoma. J Pediatr Hematol Oncol 25 (4): 292-6, 2003.12679642 22566289
Simon B, Lee SJ, Partridge AH, et al.: Preserving fertility after cancer. CA Cancer J Clin 55 (4): 211-28; quiz 263-4, 2005 Jul-Aug.16020423
Lee S, Kil WJ, Chun M, et al.: Chemotherapy-related amenorrhea in premenopausal women with breast cancer. Menopause 16 (1): 98-103, 2009 Jan-Feb.18849877
DeSantis M, Albrecht W, Höltl W, et al.: Impact of cytotoxic treatment on long-term fertility in patients with germ-cell cancer. Int J Cancer 83 (6): 864-5, 1999.10597213 20065081
Soloway CT, Soloway MS, Kim SS, et al.: Sexual, psychological and dyadic qualities of the prostate cancer 'couple'. BJU Int 95 (6): 780-5, 2005.15794782
Schover LR: Sexuality and Fertility After Cancer. New York, NY: John Wiley and Sons, 1997.
Socié G, Salooja N, Cohen A, et al.: Nonmalignant late effects after allogeneic stem cell transplantation. Blood 101 (9): 3373-85, 2003.12511420 22592436
Gradishar WJ, Schilsky RL: Effects of cancer treatment on the reproductive system. Crit Rev Oncol Hematol 8 (2): 153-71, 1988.3046766 88327972
Donnez J, Bassil S: Indications for cryopreservation of ovarian tissue. Hum Reprod Update 4 (3): 248-59, 1998 May-Jun.9741709 98412740
Green DM, Kawashima T, Stovall M, et al.: Fertility of female survivors of childhood cancer: a report from the childhood cancer survivor study. J Clin Oncol 27 (16): 2677-85, 2009.19364965
Morice P, Thiam-Ba R, Castaigne D, et al.: Fertility results after ovarian transposition for pelvic malignancies treated by external irradiation or brachytherapy. Hum Reprod 13 (3): 660-3, 1998.9572430 98232142
Linsenmeyer TA: Management of male infertility. In: Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997, pp 487-510.
Schrader M, Mller M, Sofikitis N, et al.: "Onco-tese": testicular sperm extraction in azoospermic cancer patients before chemotherapy-new guidelines? Urology 61 (2): 421-5, 2003.12597960 22487482
Bahadur G, Ling KL, Hart R, et al.: Semen quality and cryopreservation in adolescent cancer patients. Hum Reprod 17 (12): 3157-61, 2002.12456617
Saito K, Suzuki K, Iwasaki A, et al.: Sperm cryopreservation before cancer chemotherapy helps in the emotional battle against cancer. Cancer 104 (3): 521-4, 2005.15968690
Welner SL: Management of female infertility. In: Sipski ML, Alexander CJ, eds.: Sexual Function in People With Disability and Chronic Illness. Gaithersburg, Md: Aspen Publishers, Inc, 1997, pp 537-556.
Fabbri R, Venturoli S, D'Errico A, et al.: Ovarian tissue banking and fertility preservation in cancer patients: histological and immunohistochemical evaluation. Gynecol Oncol 89 (2): 259-66, 2003.12713989
Pal L, Leykin L, Schifren JL, et al.: Malignancy may adversely influence the quality and behaviour of oocytes. Hum Reprod 13 (7): 1837-40, 1998.9740435 98411151
Meirow D, Levron J, Eldar-Geva T, et al.: Pregnancy after transplantation of cryopreserved ovarian tissue in a patient with ovarian failure after chemotherapy. N Engl J Med 353 (3): 318-21, 2005.15983020
Grifo JA, Noyes N: Delivery rate using cryopreserved oocytes is comparable to conventional in vitro fertilization using fresh oocytes: potential fertility preservation for female cancer patients. Fertil Steril 93 (2): 391-6, 2010.19439285
Fosså SD, Magelssen H, Melve K, et al.: Parenthood in survivors after adulthood cancer and perinatal health in their offspring: a preliminary report. J Natl Cancer Inst Monogr (34): 77-82, 2005.15784830
Blackhall FH, Atkinson AD, Maaya MB, et al.: Semen cryopreservation, utilisation and reproductive outcome in men treated for Hodgkin's disease. Br J Cancer 87 (4): 381-4, 2002.12177773 22165646
Ragni G, Somigliana E, Restelli L, et al.: Sperm banking and rate of assisted reproduction treatment: insights from a 15-year cryopreservation program for male cancer patients. Cancer 97 (7): 1624-9, 2003.12655518 22540935
Boyle KE, Vlahos N, Jarow JP: Assisted reproductive technology in the new millennium: part II. Urology 63 (2): 217-24, 2004.14972457
Kamischke A, Jürgens H, Hertle L, et al.: Cryopreservation of sperm from adolescents and adults with malignancies. J Androl 25 (4): 586-92, 2004 Jul-Aug.15223847
Damani MN, Master V, Meng MV, et al.: Postchemotherapy ejaculatory azoospermia: fatherhood with sperm from testis tissue with intracytoplasmic sperm injection. J Clin Oncol 20 (4): 930-6, 2002.11844813 21833559
Schover LR, Thomas AJ: Overcoming Male Infertility. New York, NY: John Wiley & Sons, 2000.

## Changes to This Summary (09/04/2013)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial and formatting changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (http://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® - NCI's Comprehensive Cancer Database (http://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about sexuality and reproductive issues that cancer patients may experience during or after treatment. It is intended as a resource to inform and assist clinicians who care for cancer patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (http://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewer for Sexuality and Reproductive Issues is:

- Debra Barton, RN, PhD, AOCN, FAAN (University of Michigan, School of Nursing)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (http://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

National Cancer Institute: PDQ® Sexuality and Reproductive Issues. Bethesda, MD: National Cancer Institute. Date last modified <MM/DD/YYYY>. Available at: http://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-fertility-women/sexuality-hp-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (http://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (http://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (http://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (http://www.cancer.gov/contact/email-us).